# Gastrointestinal Neuroendocrine Tumors Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult gastrointestinal neuroendocrine tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Gastrointestinal Neuroendocrine (Carcinoid) Tumors

### Epidemiology

The age-adjusted incidence of neuroendocrine (carcinoid) tumors worldwide is approximately 2 per 100,000 people.[1,2] The average age at diagnosis is 61.4 years.[3] Neuroendocrine tumors (also called NETs) represent about 0.5% of all newly diagnosed malignancies.[2,3]

### Anatomy

Neuroendocrine tumors are rare, slow-growing tumors that originate in cells of the diffuse neuroendocrine system. They occur most frequently in tissues derived from the embryonic gut. Foregut tumors, which account for up to 25% of cases, arise in the lung, thymus, stomach, or proximal duodenum. Midgut tumors, which account for up to 50% of cases, arise in the small intestine, appendix, or proximal colon. Hindgut tumors, which account for approximately 15% of cases, arise in the distal colon or rectum.[4] Other sites of origin include the gallbladder, kidney, liver, pancreas, ovary, and testis.[3-5]

Gastrointestinal neuroendocrine tumors, especially tumors of the small intestine, are often associated with other cancers. Synchronous or metachronous cancers occur in approximately 29% of patients with small intestinal neuroendocrine tumors.[3] However, it is possible that the association may be due in part to the serendipitous discovery of slow-growing neuroendocrine tumors, which are found while staging or investigating symptoms from other tumors.

### Histology

The term carcinoid may be used for well-differentiated neuroendocrine tumors or carcinomas of the gastrointestinal tract only. The term should not be used to describe pancreatic neuroendocrine tumors or islet cell tumors.[6] Data regarding carcinoids and other neuroendocrine tumors, such as poorly differentiated neuroendocrine carcinomas, may be combined in some epidemiological and clinical studies, rendering separate consideration difficult. Occurring nonrandomly throughout the gastrointestinal tract are more than 14 cell types, which produce different hormones.[7] Although the cellular origin of neuroendocrine tumors of the gastrointestinal tract is uncertain, consistent expression of cytokeratins in neuroendocrine tumors and the expression of the caudal-related homeodomain protein 2 (Cd2 protein), an intestinal transcription factor in endocrine tumors of the small intestine, suggests an origin from an epithelial precursor cell.[8] For more information, see Pancreatic Neuroendocrine Tumors (Islet Cell Tumors) Treatment and the Cellular and Pathological Classification of Gastrointestinal Neuroendocrine Tumors section.

Most neuroendocrine tumors of the small and large intestines occur sporadically, while others may occur within the background of an inherited neoplasia syndrome such as multiple endocrine neoplasia type 1 (MEN1) or neurofibromatosis type 1 (NF1) (e.g., gastrin-producing G-cell tumors and somatostatin-producing D-cell tumors of the duodenum, respectively).[9] Tumor multifocality is the rule within the background of neuroendocrine cell hyperplasia, but multifocality is found in approximately one-third of patients with small enterochromaffin cell tumors in the absence of proliferative or genetic factors. Clonality studies suggest that most of these neoplasms are separate primary lesions.[10,11] Gastric neuroendocrine tumors may be associated with chronic atrophic gastritis.[7]

#### Histopathology

Individual carcinoid tumors have specific histological and immunohistochemical features based on their anatomical location and endocrine cell type. However, all carcinoids share common pathological features that characterize them as well-differentiated neuroendocrine tumors.[5] In the gastric or intestinal wall, carcinoids may occur as firm white, yellow, or gray nodules and may be intramural masses or may protrude into the lumen as polypoid nodules. The overlying gastric or intestinal mucosa may be intact or have focal ulceration.

Neuroendocrine cells have uniform nuclei and abundant granular or faintly staining (clear) cytoplasm. They are present as solid or small trabecular clusters or are dispersed among other cells, which may make them difficult to recognize in sections stained with hematoxylin and eosin; immunostaining enables their exact identification.[12] At the ultrastructural level, neuroendocrine cells contain cytoplasmic membrane-bound dense-cored secretory granules (diameter >80 NM) and may also contain small clear vesicles (diameter 40–80 NM) that correspond to the synaptic vesicles of neurons.

#### Molecular genetics

Occasionally, gastrointestinal carcinoids occur in association with inherited syndromes, such as MEN1 and NF1.[13-15]

MEN1 is caused by alterations of the MEN1 gene located at chromosomal region 11q13. Most carcinoids associated with MEN1 appear to be of foregut origin.[13] NF1 is an autosomal dominant genetic disorder caused by alteration of the NF1 gene at chromosome 17q11.[16] Carcinoids in patients with NF1 appear to arise primarily in the periampullary region.[5,17,18] For more information, see Genetics of Endocrine and Neuroendocrine Neoplasias.

In sporadic gastrointestinal carcinoids, numerous chromosomal imbalances have been found by comparative genome hybridization analysis. Gains involving chromosomes 5, 14, 17 (especially 17q), and 19 and losses involving chromosomes 11 (especially 11q) and 18 appear to be the most common.[19,20]

The most common pathogenic variant in gastrointestinal carcinoids is CTNNB1. In one study, CTNNB1 exon 3 variants were found in 27 of 72 cases (37.5%).[21]

However, no consistent genetic markers for gastrointestinal carcinoid prognosis have yet been identified.[9] For more information, see the Cellular and Pathological Classification of Gastrointestinal Neuroendocrine Tumors section.

#### Carcinoid syndrome

Carcinoid syndrome, which occurs in fewer than 20% of patients with neuroendocrine tumors, is caused by the release of metabolically undergraded vasoactive amines into the systemic circulation. It is associated with flushing, abdominal pain and diarrhea, bronchoconstriction, and carcinoid heart disease.[22,23] Because vasoactive amines are efficiently metabolized by the liver, carcinoid syndrome rarely occurs in the absence of hepatic metastases. Exceptions include circumstances in which venous blood draining from a tumor enters directly into the systemic circulation (e.g., primary pulmonary or ovarian carcinoids, pelvic or retroperitoneal involvement by metastatic or locally invasive small bowel carcinoids, or extensive bone metastases).

Carcinoid heart disease develops in more than one-third of patients with carcinoid syndrome. Pathologically, the cardiac valves become thickened because of fibrosis, and the tricuspid and pulmonic valves are affected to a greater extent than the mitral and aortic valves. Symptoms include:[22]

- Tricuspid and pulmonic regurgitation.
- Pulmonary stenosis.
- Mitral and aortic insufficiency.
- Cardiac dysrhythmias.

Severe carcinoid heart disease is associated with reduced survival. For more information, see the Prognostic Factors section.

### Site-Specific Clinical Features

The clinical features of gastrointestinal neuroendocrine tumors vary according to anatomical location and cell type.[5,12,24] Most neuroendocrine tumors in the gastrointestinal tract are located within 3 feet (~90 cm) of the ileocecal valve, with 50% found in the appendix.[25] They are often detected fortuitously during surgery for another gastrointestinal disorder or during emergency surgery for appendicitis, gastrointestinal bleeding, or perforation.[26]

#### Gastric neuroendocrine tumors

Most gastric neuroendocrine tumors are enterochromaffin-like (ECL)-cell neuroendocrine tumors; rarely, other types may occur in the stomach. For more information, see Table 1.

Type I ECL-cell gastric neuroendocrine tumors, the most common type, typically do not have clinical symptoms. They are often discovered during endoscopy for reflux, anemia, or other reasons. They are typically multifocal. Occurring most commonly in women (female-to-male ratio, 2.5:1) at a mean age of 63 years, achlorhydria may be present, and hypergastrinemia or evidence of antral G-cell hyperplasia is usually found.[5,24,27] These tumors are gastrin-driven and arise in a background of chronic atrophic gastritis of the corpus, usually because of autoimmune pernicious anemia but sometimes caused by Helicobacter pylori infection.[9]

Type II ECL-cell neuroendocrine tumors, the least common type of gastric neuroendocrine tumor, occur at a mean age of 50 years with no sex predilection. The hypergastrinemia associated with MEN1-Zollinger-Ellison syndrome (ZES) is thought to promote the ECL-cell hyperplasia that leads to type II tumors.[27,28]

Type I and type II ECL-cell gastric neuroendocrine tumors have been reported to metastasize in fewer than 10% of cases.[27,29] Type III gastric ECL-cell neuroendocrine tumors, the second most common type of gastric neuroendocrine tumor, occur mostly in men (male-to-female ratio, 2.8:1) at a mean age of 55 years.[27] There are no neuroendocrine manifestations, and patients typically present with signs and symptoms related to an aggressive tumor.[5,30]

#### Duodenal neuroendocrine tumors

Duodenal neuroendocrine tumors comprise only 2% to 3% of gastrointestinal neuroendocrine tumors. They are discovered incidentally or because of symptoms from hormonal or peptide production. These tumors may also arise in the periampullary region, obstruct the ampulla of Vater, and produce jaundice.[3,5,31] The age at presentation varies widely (range, 19–90 years; mean age, 53 years).[15,32]

The most common duodenal neuroendocrine tumors are gastrin-producing G-cell tumors (~two-thirds), followed by somatostatin-producing D-cell tumors (~one-fifth), which rarely produce systemic manifestations of somatostatin excess.[5,31,33]

Gastrin production from G-cell neuroendocrine tumors (also called gastrinomas if serum gastrin levels are elevated) results in ZES in approximately one-third of the cases of duodenal G-cell tumors.[24] Although duodenal G-cell neuroendocrine tumors may occur sporadically, 90% of patients with MEN1 develop them.[5] The clinical manifestations of serum gastrin elevation include:

- Nausea.
- Vomiting.
- Abdominal pain.
- Hemorrhage from multiple and recurrent peptic ulcers.
- Gastroesophageal reflux caused by excess acid production.
- Diarrhea from hypergastrinemia.

The most common symptom is abdominal pain; both abdominal pain and diarrhea are present in approximately 50% of patients. In contrast to sporadic gastrinomas, which are usually solitary lesions, gastrinomas in patients with MEN1-ZES are usually multiple and smaller than 5 mm.[5]

Somatostatin-producing D-cell tumors occur exclusively in and around the ampulla of Vater, and as many as 50% of patients with D-cell neuroendocrine tumors have NF1.[34] Most patients with this type of tumor and NF1 are Black women, and their tumors are exclusively located in the periampullary region.[15,32] As a result of their location, these tumors may cause local obstructive symptoms and signs such as jaundice, pancreatitis, or hemorrhage. Although D-cell tumors produce somatostatin, systemic manifestations of excess somatostatin such as steatorrhea, diarrhea, diabetes mellitus, hypochlorhydria and achlorhydria, anemia, and cholelithiasis are rare.[31]

#### Jejunal and ileal neuroendocrine tumors

Most jejunal and ileal neuroendocrine tumors are argentaffin-positive, substance P–containing, and serotonin-producing EC-cell tumors that generate carcinoid syndrome when hepatic or retroperitoneal nodal metastases are present. L-cell, glucagon-like polypeptide-producing, and pancreatic polypeptide- and polypeptide YY-producing tumors occur less frequently.[24] Ileal neuroendocrine tumors develop preferentially in the terminal ileum.[12] Jejunal and ileal neuroendocrine tumors occur equally in men and women at a mean age of 65.4 years.[3] Similar to all neuroendocrine tumors, jejunal and ileal neuroendocrine tumors vary in their biological behavior and ability to metastasize. Typically, EC-cell neuroendocrine tumors of the small intestine metastasize to lymph nodes and the liver.[5] Patients with these lesions may be asymptomatic. The primary tumor may cause small intestinal obstruction, ischemia, or bleeding, and some patients may complain of a long history of intermittent crampy abdominal pain, weight loss, fatigue, abdominal distention, diarrhea, or nausea and vomiting.[5,23,35]

At the time of diagnosis, ileal neuroendocrine tumors (i.e., carcinoids plus poorly differentiated neuroendocrine carcinomas) are commonly larger than 2 cm and have metastasized to regional lymph nodes; in as many as 40% of cases, the tumors are multifocal.[12] Immunocytochemically, the cells contain serotonin, substance P, kallikrein, and catecholamine. Approximately 20% of patients with ileal neuroendocrine tumors have regional lymph node and liver metastases. Most gastrointestinal neuroendocrine tumors secrete their bioactive peptides and amines into the portal circulation, and the effects of these biochemical mediators are diminished or negated by hepatic detoxification; accordingly, carcinoid syndrome (e.g., flush, diarrhea, and endocardial fibrosis) occurs only in patients with liver metastases because hepatic detoxification of serotonin is bypassed.

#### Appendiceal neuroendocrine tumors

Most appendiceal neuroendocrine tumors are serotonin-producing EC-cell tumors similar to neuroendocrine tumors that occur in the jejunum and ileum. Less commonly, appendiceal neuroendocrine tumors are L-cell tumors similar to those in the colon.[16] The biological behavior of both cell types is strikingly different in the appendix compared with tumors of the ileum and nonappendiceal colon. Most appendiceal neuroendocrine tumors have a benign clinical course and do not metastasize, perhaps because growth in the appendix produces obstruction, appendicitis, and subsequent surgical removal.[5,36] Although appendiceal neuroendocrine tumors occur at all ages, patients with these tumors tend to be much younger than patients diagnosed with other appendiceal neoplasms or carcinoids at other sites. Appendiceal neuroendocrine tumors are reportedly more common in women.[3,5] However, age and sex patterns may be spurious, reflecting the younger age range of patients who typically undergo appendectomy for inflammatory appendicitis, and the larger number of incidental appendectomies performed in women during pelvic operations. For more information, see Pediatric Gastrointestinal Neuroendocrine Tumors Treatment.

#### Colorectal neuroendocrine tumors

Most colorectal neuroendocrine tumors occur in the rectum; fewer arise in the cecum.[5] In the cecum, argentaffin-like EC-cell neuroendocrine tumors are most common, become increasingly less common in the more distal colon, and are uncommon in the rectum.[31] Rectal neuroendocrine tumors account for approximately one-fourth of gastrointestinal neuroendocrine tumors and fewer than 1% of all rectal cancers.[3,31] Most rectal neuroendocrine tumors have L-cell differentiation. The mean age of patients at diagnosis for colonic neuroendocrine tumors is 66 years and for rectal neuroendocrine tumors, 56.2 years. Colorectal neuroendocrine tumors have no sex predilection, and rectal neuroendocrine tumors are more common in the Black population.[3,37] Abdominal pain and weight loss are typical symptoms of colonic neuroendocrine tumors, but more than 50% of patients with rectal neuroendocrine tumors are asymptomatic, and the tumors are discovered at routine rectal examination or screening endoscopy.[24] Symptoms of rectal neuroendocrine tumors include bleeding, pain, and constipation. Metastatic disease from colonic neuroendocrine tumors may produce carcinoid syndrome, whereas metastatic disease from rectal neuroendocrine tumors is not associated with carcinoid syndrome.[5,38]

### Diagnostics: Biochemical Markers, Imaging, and Approach

#### Biochemical markers

Biochemical investigations in the diagnosis of gastrointestinal neuroendocrine tumors include the use of 24-hour urinary 5-hydroxyindoleacetic acid (5-HIAA) collection, which has a specificity of approximately 88%, although the sensitivity is reported to be as low as 35%.[39-41] A time-consuming test, 5-HIAA requires dietary avoidance of serotonin-rich foods, such as bananas, tomatoes, and eggplant.[42] Measurement of plasma chromogranin A (CgA), first described in a study of adrenal gland secretions in 1967 as one of the soluble protein fractions (also including CgB and CgC) of chromaffin granules, is also useful.[43] Although plasma levels of CgA are very sensitive markers of gastrointestinal neuroendocrine tumors, they are nonspecific because they are also elevated in other types of neuroendocrine tumors, such as pancreatic and small cell lung carcinomas.[44-46] Plasma CgA appears to be a better biochemical marker of neuroendocrine tumors than urinary 5-HIAA.[47] Numerous investigations have revealed an association between plasma CgA levels and disease severity.[26] However, false-positive plasma levels of CgA may occur in patients on proton pump inhibitors, reported to occur even with short-term, low-dose treatment.[48,49] Many other biochemical markers are associated with neuroendocrine tumors—including substance P, neurotensin, bradykinin, human chorionic gonadotropin, neuropeptide L, and pancreatic polypeptide—but none match the specificity or predictive value of 5-HIAA or CgA.[44]

#### Imaging

Imaging modalities for gastrointestinal neuroendocrine tumors include the use of somatostatin scintigraphy with indium In 111 (111In)-octreotide; bone scintigraphy with technetium Tc 99m-methylene diphosphonate (99mTc-MDP); iodine I 123-metaiodobenzylguanidine (123I-MIBG) scintigraphy; computed tomography (CT); capsule endoscopy; enteroscopy; and angiography.[26]

##### Somatostatin receptor scintigraphy

There are five different somatostatin receptor (SSTR) subtypes. More than 70% of neuroendocrine tumors of both the gastrointestinal tract and pancreas express multiple subtypes, with a predominance of receptor subtype 2 [sst(2)] and receptor subtype 5 [sst(5)].[50,51] The synthetic radiolabeled SSTR analogue 111In-DTP-d-Phe10-{octreotide} affords an important method, somatostatin receptor scintigraphy (SRS), to localize carcinoid tumors, especially sst(2)-positive and sst(5)-positive tumors; imaging is accomplished in one session, and small primary tumors and metastases are diagnosed more readily than with conventional imaging or imaging techniques requiring multiple sessions.[26,52,53] Overall sensitivity of the octreotide scan is reported to be as high as 90%; however, failed detection may result from various technical issues, small tumor size, or inadequate expression of SSTRs.[26,54]

##### Bone scintigraphy

Bone scintigraphy with 99mTc-MDP is the primary imaging modality for identifying bone involvement in neuroendocrine tumors, with detection rates reported to be 90% or higher.[26] 123I-MIBG is concentrated by neuroendocrine tumors in as many as 70% of cases, using the same mechanism as norepinephrine, and is used successfully to visualize neuroendocrine tumors. However, 123I-MIBG appears to be about half as sensitive as 111In-octreotide scintigraphy in detecting tumors.[26,55]

##### CT/MRI

CT and magnetic resonance imaging (MRI) are important modalities used in the initial localization of primary neuroendocrine tumors and/or metastases. The median detection rate and sensitivity of CT and/or MRI have been estimated at 80%. Detection rates by CT alone range between 76% and 100%, while MRI detection rates are between 67% and 100%.[26] CT and MRI may be used for initial localization of the tumor only because both imaging techniques may miss lesions otherwise detected by 111In-octreotide scintigraphy. One study has shown that lesions in 50% of patients were missed, especially in lymph nodes and extrahepatic locations.[26,56]

##### PET

A promising approach for positron emission tomography (PET) as an imaging modality to visualize gastrointestinal neuroendocrine tumors appears to be the use of the radioactive-labeled serotonin precursor carbon C 11-5-hydroxytryptophan (11C-5-HTP). With 11C-5-HTP, tumor detection rates have been reported to be as high as 100%, and some investigators have concluded that 11C-5-HTP PET should be used as a universal method for detecting neuroendocrine tumors.[57-59] In one study of neuroendocrine tumors, including 18 patients with gastrointestinal carcinoids, 11C-5-HTP PET detected tumor lesions in 95% of patients. In 58% of cases, 11C-5-HTP PET detected more lesions than SRS and CT, compared with the 7% that 11C-5-HTP PET did not detect.[59] Other imaging approaches have been investigated using technetium-labeled isotopes, combining CT/MRI with fluorine F 18-fluorodopa PET, combining iodine I 131-MIBG with 111In-octreotide, and coupling the isotopes gallium Ga 68 and copper Cu 64 to octreotide.[26]

##### EUS

Endoscopic ultrasonography (EUS) may be a sensitive method for the detection of gastric and duodenal neuroendocrine tumors and may be superior to conventional ultrasonography, particularly in the detection of small tumors (2–3 mm) that are localized in the bowel lumen.[60,61] In one study, EUS was reported to have an accuracy of 90% for the localization and staging of colorectal neuroendocrine tumors.[62]

##### Capsule endoscopy

Capsule endoscopy may prove useful in the detection of small bowel carcinoids.[63]

##### Enteroscopy

Double-balloon enteroscopy is a time-consuming procedure that is being studied in the diagnosis of small bowel tumors, including neuroendocrine tumors.[64,65] It is usually performed under general anesthesia, although it can be done under conscious sedation.

##### Angiography

MRI angiography has replaced angiography to a large extent. However, selective and supraselective angiography may be useful to:

- Demonstrate the degree of tumor vascularity.
- Identify the sources of vascular supply.
- Delineate the relationship of the tumor to adjacent major vascular structures.
- Provide information regarding vascular invasion.

Angiography may be useful as an adjunct to surgery, particularly in the case of large invasive lesions in proximity to the portal vein and superior mesenteric artery. Overall, this imaging technique provides a more precise topographic delineation of the tumor or tumor-related vessels and facilitates resection.[26]

#### General diagnostic approaches

As might be expected, diagnostic approaches to gastrointestinal neuroendocrine tumors vary according to anatomical location. In 2004, a consensus statement regarding the diagnosis and treatment of gastrointestinal neuroendocrine tumors was published on behalf of the European Neuroendocrine Tumor Society,[66] which details site-specific approaches to diagnosis.

### Prognostic Factors

Factors that determine the clinical course and outcome of patients with gastrointestinal neuroendocrine tumors are complex and multifaceted and include:[67]

- The site of origin.
- The size of the primary tumor.
- The anatomical extent of disease.

Elevated expression of the proliferation antigen Ki-67 and the tumor suppressor protein p53 have been associated with poorer prognosis; however, some investigators suggest that the Ki-67 index may be helpful in establishing prognosis of gastric lesions only and maintain that no consistent genetic markers of prognosis have yet been discovered.[9] Adverse clinical prognostic indicators include:

- Carcinoid syndrome.
- Carcinoid heart disease.
- High concentrations of the tumor markers urinary 5-HIAA and plasma chromogranin A.

### Follow-Up and Survivorship

In general, patients with neuroendocrine tumors of the appendix and rectum experience longer survival than patients with tumors of the stomach, small intestine, and colon. Neuroendocrine tumors in the small intestine, even small ones, are more likely to metastasize than those in the appendix, colon, and rectum.[67] Appendiceal and rectal neuroendocrine tumors are usually small at initial detection and have rarely metastasized. The presence of metastases has been associated with a reduction in 5-year survival ranging from 39% to 60% in several case series and reviews.[3,68-71] Some patients with metastatic neuroendocrine tumors have an indolent clinical course with survival of several years, whereas others experience an aggressively malignant course with short survival. Although metastases are associated with a shorter survival in large patient samples, the presence of metastases alone does not sufficiently predict the clinical course of the individual patient.

Approximately 35% of neuroendocrine tumors of the small intestine are associated with carcinoid syndrome. The relatively common neuroendocrine tumors of the appendix and rectum rarely produce this syndrome, and neuroendocrine tumors from other sites have intermediate risks.[71,72] Investigations using echocardiographic criteria for carcinoid heart disease found prevalences ranging from 35% to 77% among patients with carcinoid syndrome.[73-77] The tricuspid valve is affected more frequently and severely than the pulmonic valve, and the presence and severity of carcinoid heart disease, particularly tricuspid valve dysfunction, is associated with shortened survival.[74,76-78] One study involving 64 patients with midgut carcinoid syndrome found 5-year survival rates of 30% for those with severe carcinoid heart disease versus 75% for those with no cardiac disease.[76]

In another study, statistically significantly reduced survival was observed for patients with midgut neuroendocrine tumors who had urinary 5-HIAA concentrations greater than 300 μmol/24 hours compared with patients who had lower concentrations of urinary 5-HIAA.[79] Correspondingly, a study of patients with midgut carcinoid syndrome showed that urinary 5-HIAA levels greater than 500 μmol/24 hours were associated with shorter survival.[76] The degree of elevation of urinary 5-HIAA is also associated with the severity of carcinoid symptoms, with the highest levels being observed in patients with carcinoid heart failure.[76,80] In one study, vascular endothelial growth factor (VEGF) expression by low-grade tumors and surrounding stromal cells was associated with progression-free survival (PFS); median durations of PFS in patients with strong and weak VEGF expression were 29 months and 81 months, respectively.[81]

### References

Crocetti E, Paci E: Malignant carcinoids in the USA, SEER 1992-1999. An epidemiological study with 6830 cases. Eur J Cancer Prev 12 (3): 191-4, 2003.12771556
Taal BG, Visser O: Epidemiology of neuroendocrine tumours. Neuroendocrinology 80 (Suppl 1): 3-7, 2004.15477707
Modlin IM, Lye KD, Kidd M: A 5-decade analysis of 13,715 carcinoid tumors. Cancer 97 (4): 934-59, 2003.12569593
Scarsbrook AF, Ganeshan A, Statham J, et al.: Anatomic and functional imaging of metastatic carcinoid tumors. Radiographics 27 (2): 455-77, 2007 Mar-Apr.17374863
Levy AD, Sobin LH: From the archives of the AFIP: Gastrointestinal carcinoids: imaging features with clinicopathologic comparison. Radiographics 27 (1): 237-57, 2007 Jan-Feb.17235010
Arnold R: Endocrine tumours of the gastrointestinal tract. Introduction: definition, historical aspects, classification, staging, prognosis and therapeutic options. Best Pract Res Clin Gastroenterol 19 (4): 491-505, 2005.16183523
Klöppel G, Anlauf M: Epidemiology, tumour biology and histopathological classification of neuroendocrine tumours of the gastrointestinal tract. Best Pract Res Clin Gastroenterol 19 (4): 507-17, 2005.16183524
Barbareschi M, Roldo C, Zamboni G, et al.: CDX-2 homeobox gene product expression in neuroendocrine tumors: its role as a marker of intestinal neuroendocrine tumors. Am J Surg Pathol 28 (9): 1169-76, 2004.15316316
Williams GT: Endocrine tumours of the gastrointestinal tract-selected topics. Histopathology 50 (1): 30-41, 2007.17204019
Yantiss RK, Odze RD, Farraye FA, et al.: Solitary versus multiple carcinoid tumors of the ileum: a clinical and pathologic review of 68 cases. Am J Surg Pathol 27 (6): 811-7, 2003.12766586
Katona TM, Jones TD, Wang M, et al.: Molecular evidence for independent origin of multifocal neuroendocrine tumors of the enteropancreatic axis. Cancer Res 66 (9): 4936-42, 2006.16651451
Klöppel G: Tumour biology and histopathology of neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 15-31, 2007.17382263
Duh QY, Hybarger CP, Geist R, et al.: Carcinoids associated with multiple endocrine neoplasia syndromes. Am J Surg 154 (1): 142-8, 1987.2886072
Levy AD, Patel N, Dow N, et al.: From the archives of the AFIP: abdominal neoplasms in patients with neurofibromatosis type 1: radiologic-pathologic correlation. Radiographics 25 (2): 455-80, 2005 Mar-Apr.15798063
Levy AD, Taylor LD, Abbott RM, et al.: Duodenal carcinoids: imaging features with clinical-pathologic comparison. Radiology 237 (3): 967-72, 2005.16237144
Zikusoka MN, Kidd M, Eick G, et al.: The molecular genetics of gastroenteropancreatic neuroendocrine tumors. Cancer 104 (11): 2292-309, 2005.16258976
Karatzas G, Kouraklis G, Karayiannakis A, et al.: Ampullary carcinoid and jejunal stromal tumour associated with von Recklinghausen's disease presenting as gastrointestinal bleeding and jaundice. Eur J Surg Oncol 26 (4): 428-9, 2000.10873367
Mayoral W, Salcedo J, Al-Kawas F: Ampullary carcinoid tumor presenting as acute pancreatitis in a patient with von Recklinghausen's disease: case report and review of the literature. Endoscopy 35 (10): 854-7, 2003.14551865
Tönnies H, Toliat MR, Ramel C, et al.: Analysis of sporadic neuroendocrine tumours of the enteropancreatic system by comparative genomic hybridisation. Gut 48 (4): 536-41, 2001.11247899
Terris B, Meddeb M, Marchio A, et al.: Comparative genomic hybridization analysis of sporadic neuroendocrine tumors of the digestive system. Genes Chromosomes Cancer 22 (1): 50-6, 1998.9591634
Fujimori M, Ikeda S, Shimizu Y, et al.: Accumulation of beta-catenin protein and mutations in exon 3 of beta-catenin gene in gastrointestinal carcinoid tumor. Cancer Res 61 (18): 6656-9, 2001.11559529
Dierdorf SF: Carcinoid tumor and carcinoid syndrome. Curr Opin Anaesthesiol 16 (3): 343-7, 2003.17021482
Sweeney JF, Rosemurgy AS: Carcinoid Tumors of the Gut. Cancer Control 4 (1): 18-24, 1997.10762999
Capella C, Solcia E, Sobin L, et al.: Endocrine tumours of the small intestine. In: Hamilton SR, Aaltonen LA: Pathology and Genetics of Tumours of the Digestive System. International Agency for Research on Cancer, 2000, pp 67-90.
Northrop JA, Lee JH: Large bowel carcinoid tumors. Curr Opin Gastroenterol 23 (1): 74-8, 2007.17133089
Modlin IM, Latich I, Zikusoka M, et al.: Gastrointestinal carcinoids: the evolution of diagnostic strategies. J Clin Gastroenterol 40 (7): 572-82, 2006.16917396
Rindi G, Bordi C, Rappel S, et al.: Gastric carcinoids and neuroendocrine carcinomas: pathogenesis, pathology, and behavior. World J Surg 20 (2): 168-72, 1996.8661813
Solcia E, Capella C, Fiocca R, et al.: Gastric argyrophil carcinoidosis in patients with Zollinger-Ellison syndrome due to type 1 multiple endocrine neoplasia. A newly recognized association. Am J Surg Pathol 14 (6): 503-13, 1990.1970928
Rindi G, Luinetti O, Cornaggia M, et al.: Three subtypes of gastric argyrophil carcinoid and the gastric neuroendocrine carcinoma: a clinicopathologic study. Gastroenterology 104 (4): 994-1006, 1993.7681798
Debelenko LV, Emmert-Buck MR, Zhuang Z, et al.: The multiple endocrine neoplasia type I gene locus is involved in the pathogenesis of type II gastric carcinoids. Gastroenterology 113 (3): 773-81, 1997.9287968
Riddell R, Petras R, Williams G, et al.: Tumors of the Intestines. Armed Forces Institute of Pathology, 2003.
Burke AP, Sobin LH, Shekitka KM, et al.: Somatostatin-producing duodenal carcinoids in patients with von Recklinghausen's neurofibromatosis. A predilection for black patients. Cancer 65 (7): 1591-5, 1990.1968779
Klöppel G, Perren A, Heitz PU: The gastroenteropancreatic neuroendocrine cell system and its tumors: the WHO classification. Ann N Y Acad Sci 1014: 13-27, 2004.15153416
Dayal Y, Tallberg KA, Nunnemacher G, et al.: Duodenal carcinoids in patients with and without neurofibromatosis. A comparative study. Am J Surg Pathol 10 (5): 348-57, 1986.2422964
Akerström G, Hellman P, Hessman O, et al.: Management of midgut carcinoids. J Surg Oncol 89 (3): 161-9, 2005.15719373
Gore RM, Berlin JW, Mehta UK, et al.: GI carcinoid tumours: appearance of the primary and detecting metastases. Best Pract Res Clin Endocrinol Metab 19 (2): 245-63, 2005.15763699
Modlin IM, Sandor A: An analysis of 8305 cases of carcinoid tumors. Cancer 79 (4): 813-29, 1997.9024720 97177168
Jetmore AB, Ray JE, Gathright JB, et al.: Rectal carcinoids: the most frequent carcinoid tumor. Dis Colon Rectum 35 (8): 717-25, 1992.1643994
Tormey WP, FitzGerald RJ: The clinical and laboratory correlates of an increased urinary 5-hydroxyindoleacetic acid. Postgrad Med J 71 (839): 542-5, 1995.7479466 96085678
Bajetta E, Ferrari L, Martinetti A, et al.: Chromogranin A, neuron specific enolase, carcinoembryonic antigen, and hydroxyindole acetic acid evaluation in patients with neuroendocrine tumors. Cancer 86 (5): 858-65, 1999.10463986
Seregni E, Ferrari L, Bajetta E, et al.: Clinical significance of blood chromogranin A measurement in neuroendocrine tumours. Ann Oncol 12 (Suppl 2): S69-72, 2001.11762355
Feldman JM, Lee EM: Serotonin content of foods: effect on urinary excretion of 5-hydroxyindoleacetic acid. Am J Clin Nutr 42 (4): 639-43, 1985.2413754
Blaschko H, Comline RS, Schneider FH, et al.: Secretion of a chromaffin granule protein, chromogranin, from the adrenal gland after splanchnic stimulation. Nature 215 (5096): 58-9, 1967.6053402
Eriksson B, Oberg K: Peptide hormones as tumor markers in neuroendocrine gastrointestinal tumors. Acta Oncol 30 (4): 477-83, 1991.1854505
Stridsberg M, Oberg K, Li Q, et al.: Measurements of chromogranin A, chromogranin B (secretogranin I), chromogranin C (secretogranin II) and pancreastatin in plasma and urine from patients with carcinoid tumours and endocrine pancreatic tumours. J Endocrinol 144 (1): 49-59, 1995.7891024
Drivsholm L, Paloheimo LI, Osterlind K: Chromogranin A, a significant prognostic factor in small cell lung cancer. Br J Cancer 81 (4): 667-71, 1999.10574253
Eriksson B, Arnberg H, Lindgren PG, et al.: Neuroendocrine pancreatic tumours: clinical presentation, biochemical and histopathological findings in 84 patients. J Intern Med 228 (2): 103-13, 1990.2168468
Sanduleanu S, De Bruïne A, Stridsberg M, et al.: Serum chromogranin A as a screening test for gastric enterochromaffin-like cell hyperplasia during acid-suppressive therapy. Eur J Clin Invest 31 (9): 802-11, 2001.11589723
Giusti M, Sidoti M, Augeri C, et al.: Effect of short-term treatment with low dosages of the proton-pump inhibitor omeprazole on serum chromogranin A levels in man. Eur J Endocrinol 150 (3): 299-303, 2004.15012614
Reubi JC, Kvols L, Krenning E, et al.: Distribution of somatostatin receptors in normal and tumor tissue. Metabolism 39 (9 Suppl 2): 78-81, 1990.2169575
de Herder WW, Hofland LJ, van der Lely AJ, et al.: Somatostatin receptors in gastroentero-pancreatic neuroendocrine tumours. Endocr Relat Cancer 10 (4): 451-8, 2003.14713257
Modlin IM, Tang LH: Approaches to the diagnosis of gut neuroendocrine tumors: the last word (today). Gastroenterology 112 (2): 583-90, 1997.9024313
Mufarrij P, Varkarakis IM, Studeman KD, et al.: Primary renal carcinoid tumor with liver metastases detected with somatostatin receptor imaging. Urology 65 (5): 1002, 2005.15882749
Krenning EP, Kooij PP, Bakker WH, et al.: Radiotherapy with a radiolabeled somatostatin analogue, [111In-DTPA-D-Phe1]-octreotide. A case history. Ann N Y Acad Sci 733: 496-506, 1994.7978900
Hoefnagel CA, den Hartog Jager FC, Taal BG, et al.: The role of I-131-MIBG in the diagnosis and therapy of carcinoids. Eur J Nucl Med 13 (4): 187-91, 1987.2441993
Shi W, Johnston CF, Buchanan KD, et al.: Localization of neuroendocrine tumours with [111In] DTPA-octreotide scintigraphy (Octreoscan): a comparative study with CT and MR imaging. QJM 91 (4): 295-301, 1998.9666953
Orlefors H, Sundin A, Ahlström H, et al.: Positron emission tomography with 5-hydroxytryprophan in neuroendocrine tumors. J Clin Oncol 16 (7): 2534-41, 1998.9667275
Sundin A, Eriksson B, Bergström M, et al.: PET in the diagnosis of neuroendocrine tumors. Ann N Y Acad Sci 1014: 246-57, 2004.15153441
Orlefors H, Sundin A, Garske U, et al.: Whole-body (11)C-5-hydroxytryptophan positron emission tomography as a universal imaging technique for neuroendocrine tumors: comparison with somatostatin receptor scintigraphy and computed tomography. J Clin Endocrinol Metab 90 (6): 3392-400, 2005.15755858
Rösch T, Lightdale CJ, Botet JF, et al.: Localization of pancreatic endocrine tumors by endoscopic ultrasonography. N Engl J Med 326 (26): 1721-6, 1992.1317506
Zimmer T, Ziegler K, Liehr RM, et al.: Endosonography of neuroendocrine tumors of the stomach, duodenum, and pancreas. Ann N Y Acad Sci 733: 425-36, 1994.7978891
Yoshida M, Tsukamoto Y, Niwa Y, et al.: Endoscopic assessment of invasion of colorectal tumors with a new high-frequency ultrasound probe. Gastrointest Endosc 41 (6): 587-92, 1995.7672554
Coates SW, DeMarco DC: Metastatic carcinoid tumor discovered by capsule endoscopy and not detected by esophagogastroduodenoscopy. Dig Dis Sci 49 (4): 639-41, 2004.15185871
Bellutti M, Fry LC, Schmitt J, et al.: Detection of neuroendocrine tumors of the small bowel by double balloon enteroscopy. Dig Dis Sci 54 (5): 1050-8, 2009.18770038
Almeida N, Figueiredo P, Lopes S, et al.: Double-balloon enteroscopy and small bowel tumors: a South-European single-center experience. Dig Dis Sci 54 (7): 1520-4, 2009.18958620
Plöckinger U, Rindi G, Arnold R, et al.: Guidelines for the diagnosis and treatment of neuroendocrine gastrointestinal tumours. A consensus statement on behalf of the European Neuroendocrine Tumour Society (ENETS). Neuroendocrinology 80 (6): 394-424, 2004.15838182
Rorstad O: Prognostic indicators for carcinoid neuroendocrine tumors of the gastrointestinal tract. J Surg Oncol 89 (3): 151-60, 2005.15719376
Soga J: Carcinoids of the rectum: an evaluation of 1271 reported cases. Surg Today 27 (2): 112-9, 1997.9017986
Koura AN, Giacco GG, Curley SA, et al.: Carcinoid tumors of the rectum: effect of size, histopathology, and surgical treatment on metastasis free survival. Cancer 79 (7): 1294-8, 1997.9083149
Shebani KO, Souba WW, Finkelstein DM, et al.: Prognosis and survival in patients with gastrointestinal tract carcinoid tumors. Ann Surg 229 (6): 815-21; discussion 822-3, 1999.10363895
Soga J: Carcinoids and their variant endocrinomas. An analysis of 11842 reported cases. J Exp Clin Cancer Res 22 (4): 517-30, 2003.15053292
Soga J, Yakuwa Y, Osaka M: Carcinoid syndrome: a statistical evaluation of 748 reported cases. J Exp Clin Cancer Res 18 (2): 133-41, 1999.10464698
Lundin L, Norheim I, Landelius J, et al.: Carcinoid heart disease: relationship of circulating vasoactive substances to ultrasound-detectable cardiac abnormalities. Circulation 77 (2): 264-9, 1988.2448062
Pellikka PA, Tajik AJ, Khandheria BK, et al.: Carcinoid heart disease. Clinical and echocardiographic spectrum in 74 patients. Circulation 87 (4): 1188-96, 1993.7681733
Denney WD, Kemp WE, Anthony LB, et al.: Echocardiographic and biochemical evaluation of the development and progression of carcinoid heart disease. J Am Coll Cardiol 32 (4): 1017-22, 1998.9768727
Westberg G, Wängberg B, Ahlman H, et al.: Prediction of prognosis by echocardiography in patients with midgut carcinoid syndrome. Br J Surg 88 (6): 865-72, 2001.11412260
Møller JE, Connolly HM, Rubin J, et al.: Factors associated with progression of carcinoid heart disease. N Engl J Med 348 (11): 1005-15, 2003.12637610
Zuetenhorst JM, Bonfrer JM, Korse CM, et al.: Carcinoid heart disease: the role of urinary 5-hydroxyindoleacetic acid excretion and plasma levels of atrial natriuretic peptide, transforming growth factor-beta and fibroblast growth factor. Cancer 97 (7): 1609-15, 2003.12655516
Janson ET, Holmberg L, Stridsberg M, et al.: Carcinoid tumors: analysis of prognostic factors and survival in 301 patients from a referral center. Ann Oncol 8 (7): 685-90, 1997.9296223
Norheim I, Oberg K, Theodorsson-Norheim E, et al.: Malignant carcinoid tumors. An analysis of 103 patients with regard to tumor localization, hormone production, and survival. Ann Surg 206 (2): 115-25, 1987.2440390
Zhang J, Jia Z, Li Q, et al.: Elevated expression of vascular endothelial growth factor correlates with increased angiogenesis and decreased progression-free survival among patients with low-grade neuroendocrine tumors. Cancer 109 (8): 1478-86, 2007.17340592

## Cellular and Pathological Classification of Gastrointestinal Neuroendocrine Tumors

A variety of neuroendocrine cells normally populate the gastrointestinal mucosa and submucosa. The type, location, and secretory products of gastrointestinal neuroendocrine cells are well defined and are summarized in Table 1. As previously noted, individual neuroendocrine (carcinoid) tumors have specific histological and immunohistochemical features based on their anatomical location and neuroendocrine cell type. However, all carcinoids share common pathological features that characterize them as well-differentiated neuroendocrine tumors.[1]

Table 1. Gastrointestinal Neuroendocrine Cells^a^

Cell Type | Location | Secretory Product
G cell | Gastric antrum and duodenum | Gastrin
ECL cell | Gastric fundus and body | Histamine
D cell | Stomach, duodenum, jejunum, colon, and rectum | Somatostatin
EC cell | Stomach, duodenum, jejunum, ileum, colon, and rectum | Serotonin, motilin, and substance P
CCK cell | Duodenum and jejunum | Cholecystokinin
GIP cell | Duodenum and jejunum | Gastric inhibitory polypeptide
M cell | Duodenum and jejunum | Motilin
S cell | Duodenum and jejunum | Secretin
PP cell | Duodenum | Pancreatic polypeptide
L cell | Jejunum, ileum, colon, and rectum | Polypeptide YY
N cell | Jejunum and ileum | Neurotensin

CCK = cholecystokinin; D = somatostatin-producing; EC = enterochromaffin; ECL = enterochromaffin-like; G = Gastrin cell; GIP = gastric inhibitory polypeptide; L = enteroendocrine; M = motilin; N = neurotensin; PP = pancreatic polypeptide; S = secretin.

^a^ Adapted from [1 - 3]

Updated in 2000, the World Health Organization (WHO) classification is clinically and prognostically useful for patients with newly diagnosed neuroendocrine tumors of the gastrointestinal tract because it accounts for specific biological behavior according to location and tumor differentiation.[4,5]

This classification distinguishes between the following:

- Well-differentiated, mostly benign tumors with an excellent prognosis.
- Well-differentiated carcinomas with a low malignant potential and a favorable prognosis.
- Poorly differentiated carcinomas (small cell and fewer large cell), which are highly malignant and carry a poor prognosis.

In this classification, the term carcinoid (or typical carcinoid) is used only for well-differentiated neuroendocrine tumors of the gastrointestinal tract, excluding the pancreas, and the term malignant carcinoid (or atypical carcinoid) is used for the corresponding well-differentiated neuroendocrine tumors at the same gastrointestinal tract locations.[6,7] Despite some uncertainty surrounding the role of cell proliferation indices in the prognosis of neuroendocrine tumors, it is clear that poorly differentiated carcinomas are highly aggressive and require a special therapeutic approach.[7-9] In a second step, the WHO classification subdivides gastrointestinal neuroendocrine tumors on the basis of localization and biology to achieve a prognostically relevant classification of the tumors.[5-7,9] In this subclassification, gastrointestinal anatomical locations include:

- Stomach (four different types).
- Duodenum (and proximal jejunum) (five different types).
- Ileum (including the distal jejunum).
- Appendix.
- Colon-rectum.

For more information about a clinicopathological correlation of cell types and anatomical location, see the Site-Specific Clinical Features section.

In addition, in the WHO classification scheme, gastrointestinal neuroendocrine tumors have been grouped with pancreatic neuroendocrine tumors (islet cell tumors) and labeled as gastroenteropancreatic neuroendocrine tumors (GEP-NETS). However, because of differences in chromosomal alteration patterns and molecular genetics between gastrointestinal neuroendocrine tumors and pancreatic neuroendocrine tumors, some investigators have suggested that this gastroenteropancreatic neuroendocrine tumors grouping requires reassessment.[7,9,10]

Because there were no proven molecular and genetic alterations with clinical and prognostic relevance, only traditional morphological and histopathological criteria were used in the classification. In addition to the level of differentiation, these criteria include:

- Size of the tumor.
- Presence or absence of angioinvasion.
- Proliferative activity (as measured by a Ki-67 index).[5,6]

Traditional cytological and histopathological assessment of growth patterns and cellular features of well-differentiated neuroendocrine tumors seldom help predict their functional behavior and degree of malignancy. In general, typical neuroendocrine tumors in the stomach, appendix, or rectum have an excellent prognosis.[6] In contrast, poorly differentiated neuroendocrine tumors that are composed of cells displaying severe nuclear atypia, a high mitotic index, and few secretory granules are invariably high-grade malignancies.[7]

Diagnostic markers that help to identify gastrointestinal neuroendocrine tumors include:

- Cytosolic and cell-membrane markers such as neuron-specific enolase, protein gene product 9.5, histidine carboxylase, vesicular monoamine transporter 2 (VMAT2), and neural-cell adhesion molecule CD56 (high sensitivity and low specificity).
- Small vesicle-associated markers such as synaptophysin and synaptic vesicle protein 2 (high sensitivity and high specificity).
- Large secretory granule-associated markers such as chromogranins A, B, and C and CD57 (low sensitivity and high specificity).
- Somatostatin receptors.
- Specific peptide hormone markers such as serotonin, somatostatin, and gastrin.[7,8]

Hormones that are highly specific for certain gastrointestinal neuroendocrine tumors are serotonin and substance P for ileal and appendiceal NETS, and VMAT2 for ECLomas.[7]

### References

Levy AD, Sobin LH: From the archives of the AFIP: Gastrointestinal carcinoids: imaging features with clinicopathologic comparison. Radiographics 27 (1): 237-57, 2007 Jan-Feb.17235010
Hemminki K, Li X: Incidence trends and risk factors of carcinoid tumors: a nationwide epidemiologic study from Sweden. Cancer 92 (8): 2204-10, 2001.11596039
Burke AP, Thomas RM, Elsayed AM, et al.: Carcinoids of the jejunum and ileum: an immunohistochemical and clinicopathologic study of 167 cases. Cancer 79 (6): 1086-93, 1997.9070484
Capella C, Heitz PU, Höfler H, et al.: Revised classification of neuroendocrine tumours of the lung, pancreas and gut. Virchows Arch 425 (6): 547-60, 1995.7697211
Solcia E, Kloppel G, Sobin LH, et al.: Histological Typing of Endocrine Tumours. 2nd ed. Springer, 2000 .
Arnold R: Endocrine tumours of the gastrointestinal tract. Introduction: definition, historical aspects, classification, staging, prognosis and therapeutic options. Best Pract Res Clin Gastroenterol 19 (4): 491-505, 2005.16183523
Klöppel G: Tumour biology and histopathology of neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 15-31, 2007.17382263
Williams GT: Endocrine tumours of the gastrointestinal tract-selected topics. Histopathology 50 (1): 30-41, 2007.17204019
Klöppel G, Perren A, Heitz PU: The gastroenteropancreatic neuroendocrine cell system and its tumors: the WHO classification. Ann N Y Acad Sci 1014: 13-27, 2004.15153416
Zikusoka MN, Kidd M, Eick G, et al.: The molecular genetics of gastroenteropancreatic neuroendocrine tumors. Cancer 104 (11): 2292-309, 2005.16258976

## Stage Information for Gastrointestinal Neuroendocrine Tumors

### American Joint Committee on Cancer (AJCC) Stage Groupings and TNM Definitions

The AJCC has designated staging by TNM (tumor, node, metastasis) classification to define neuroendocrine tumors.[1-6]

#### Gastric neuroendocrine tumors

Table 2. Definitions of TNM Stage I Neuroendocrine Tumors of the Stomach^a^

Stage | TNM | Description
I | T1, N0, M0 | T1 = Invades the lamina propria or submucosa and ≤1 cm in size.^b^
I | T1, N0, M0 | N0 = No regional lymph node metastasis.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 351–9.

^b^The explanation for superscript b is at the end of Table 5.

Table 3. Definitions of TNM Stage II Neuroendocrine Tumors of the Stomach^a^

Stage | TNM | Description
II | T2 or T3, N0, M0 | T2 = Invades the muscularis propria or >1 cm in size.^b^
II | T2 or T3, N0, M0 | T3 = Invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.^b^
II | T2 or T3, N0, M0 | N0 = No regional lymph node metastasis.
II | T2 or T3, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 351–9.

^b^The explanation for superscript b is at the end of Table 5.

Table 4. Definitions of TNM Stage III Neuroendocrine Tumors of the Stomach^a^

Stage | TNM | Description
III | T1, T2, T3, or T4; N1; M0 | T1, T2, T3, or T4 = See Stage IV Neuroendocrine Tumors of the Stomach below in Table 5.
III | T1, T2, T3, or T4; N1; M0 | N1 = Regional lymph node metastasis.
III | T1, T2, T3, or T4; N1; M0 | M0 = No distant metastasis.
III | T4, N0, M0 | T4 = Invades visceral peritoneum (serosal) or other organs or adjacent structures.^b^
III | T4, N0, M0 | N0 = No regional lymph node metastasis.
III | T4, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 351–9.

^b^The explanation for superscript b is at the end of Table 5.

Table 5. Definitions of TNM Stage IV Neuroendocrine Tumors of the Stomach^a^

Stage | TNM | Description
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | TX = Primary tumor cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T0 = No evidence of primary tumor.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T1 = Invades the lamina propria or submucosa and ≤1 cm in size.^b^
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T2 = Invades the muscularis propria or >1 cm in size.^b^
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T3 = Invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.^b^
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T4 = Invades visceral peritoneum (serosal) or other organs or adjacent structures.^b^
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | NX = Regional lymph nodes cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | N0 = No regional lymph node metastasis.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | N1 = Regional lymph node metastasis.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors: Stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 351–9.

^b^For any T, add (m) for multiple tumors [TX(#), where X = 1−4 and # = number of primary tumors identified]; for multiple tumors with different Ts, use the highest.

#### Duodenal neuroendocrine tumors

Table 6. Definitions of TNM Stage I Neuroendocrine Tumors of the Duodenum and Ampulla of Vater^a^

Stage | TNM | Description
I | T1, N0, M0 | T1 = Tumor invades the mucosa or submucosa only and is ≤1 cm (duodenal tumors); tumor ≤1 cm and confined within the sphincter of Oddi (ampullary tumors).
I | T1, N0, M0 | N0 = No regional lymph node involvement.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Duodenum and Ampulla of Vater. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 361–73.

Table 7. Definitions of TNM Stage II Neuroendocrine Tumors of the Duodenum and Ampulla of Vater^a^

Stage | TNM | Description
II | T2 or T3; N0, M0 | T2 = Tumor invades the muscularis propria or is >1 cm (duodenal); tumor invades through sphincter into duodenal submucosa or muscularis propria, or is >1 cm (ampullary).
II | T2 or T3; N0, M0 | T3 = Tumor invades the pancreas or peripancreatic adipose tissue.
II | T2 or T3; N0, M0 | N0 = No regional lymph node involvement.
II | T2 or T3; N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Duodenum and Ampulla of Vater. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 361–73.

Table 8. Definitions of TNM Stage III Neuroendocrine Tumors of the Duodenum and Ampulla of Vater^a^

Stage | TNM | Description
III | T4, N0, M0 | T4 = Tumor invades the visceral peritoneum (serosa) or other organs.
III | T4, N0, M0 | N0 = No regional lymph node involvement.
III | T4, N0, M0 | M0 = No distant metastasis.
III | Any T, N1, M0 | Any T = See Stage IV Neuroendocrine Tumors of the Duodenum and Ampulla of Vater below in Table 9.
III | Any T, N1, M0 | N1 = Regional lymph node involvement.
III | Any T, N1, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Duodenum and Ampulla of Vater. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 361–73.

Table 9. Definitions of TNM Stage IV Neuroendocrine Tumors of the Duodenum and Ampulla of Vater^a^

Stage | TNM | Description
IV | Any T, Any N, M1 | TX = Primary tumor cannot be assessed.
IV | Any T, Any N, M1 | T1 = Tumor invades the mucosa or submucosa only and is ≤1 cm (duodenal tumors); tumor ≤1 cm and confined within the sphincter of Oddi (ampullary tumors).
IV | Any T, Any N, M1 | T2 = Tumor invades the muscularis propria or is >1 cm (duodenal); tumor invades through sphincter into duodenal submucosa or muscularis propria, or is >1 cm (ampullary).
IV | Any T, Any N, M1 | T3 = Tumor invades the pancreas or peripancreatic adipose tissue.
IV | Any T, Any N, M1 | T4 = Tumor invades the visceral peritoneum (serosa) or other organs.
IV | Any T, Any N, M1 | NX = Regional lymph nodes cannot be assessed.
IV | Any T, Any N, M1 | N0 = No regional lymph node involvement.
IV | Any T, Any N, M1 | N1 = Regional lymph node involvement.
IV | Any T, Any N, M1 | M1 = Distant metastases.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Duodenum and Ampulla of Vater. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 361–73.

#### Jejunal and ileal neuroendocrine tumors

Table 10. Definitions of TNM Stage I Neuroendocrine Tumors of the Jejunum and Ileum^a^

Stage | T^b ^NM | Description
I | T1, N0, M0 | T1 = Invades lamina propria or submucosa and ≤1 cm in size.
I | T1, N0, M0 | N0 = No regional lymph node metastasis has occurred.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Jejunum and Ileum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 375–87.

^b^The explanation for superscript b is at the end of Table 13.

Table 11. Definitions of TNM Stage II Neuroendocrine Tumors of the Jejunum and Ileum^a^

Stage | T^b^NM | Description
II | T2 or T3; N0, M0 | T2 = Invades muscularis propria or >1 cm in size.
II | T2 or T3; N0, M0 | T3 = Invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.
II | T2 or T3; N0, M0 | N0 = No regional lymph node metastasis has occurred.
II | T2 or T3; N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Jejunum and Ileum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 375–87.

^b^The explanation for superscript b is at the end of Table 13.

Table 12. Definitions of TNM Stage III Neuroendocrine Tumors of the Jejunum and Ileum^a^

Stage | T^b^NM | Description
III | T1, T2, T3, or T4; N1, N2; M0 | T1, T2, T3, or T4 = See Stage IV Neuroendocrine Tumors of the Jejunum and Ileum below in Table 13.
III | T1, T2, T3, or T4; N1, N2; M0 | N1 = Regional lymph node metastasis <12 nodes.
III | T1, T2, T3, or T4; N1, N2; M0 | N2 = Large mesenteric masses (>2 cm) and/or extensive nodal deposits (≥12), especially those that encase the superior mesenteric vessels.
III | T1, T2, T3, or T4; N1, N2; M0 | M0 = No distant metastasis.
III | T4, N0, M0 | T4 = Invades visceral peritoneum (serosal) or other organs or adjacent structures.
III | T4, N0, M0 | N0 = No regional lymph node metastasis has occurred.
III | T4, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Jejunum and Ileum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 375–87.

^b^The explanation for superscript b is at the end of Table 13.

Table 13. Definitions of TNM Stage IV Neuroendocrine Tumors of the Jejunum and Ileum^a^

Stage | T^b^NM | Description
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | TX = Primary tumor cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | T0 = No evidence of primary tumor.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | T1 = Invades lamina propria or submucosa and ≤1 cm in size.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | T2 = Invades muscularis propria or >1 cm in size.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | T3 = Invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | T4 = Invades visceral peritoneum (serosal) or other organs or adjacent structures.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | NX = Regional lymph nodes cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | N0 = No regional lymph node metastasis has occurred.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | N1 = Regional lymph node metastasis <12 nodes.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | N2 = Large mesenteric masses (>2 cm) and/or extensive nodal deposits (≥12), especially those that encase the superior mesenteric vessels.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1, N2; M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Jejunum and Ileum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 375–87.

^b^For any T, add (m) for multiple tumors [TX(#) or TX(m), where X = 1−4, and # = number of primary tumors identified^c^]; for multiple tumors with different T, use the highest.

^c^Example: If there are two primary tumors, only one of which invades through the muscularis propria into subserosal tissue without penetration of overlying serosa (jejunal or ileal), we define the primary tumor as either T3(2) or T3(m).

#### Appendiceal neuroendocrine tumors

Table 14. Definitions of TNM Stage I Neuroendocrine Tumors of the Appendix^a^

Stage | TNM | Description
I | T1, N0 M0 | T1 = Tumor ≤2 cm in greatest dimension.
I | T1, N0 M0 | N0 = No regional lymph node metastasis.
I | T1, N0 M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Appendix. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 389–94.

Table 15. Definitions of TNM Stage II Neuroendocrine Tumors of the Appendix^a^

Stage | TNM | Description
II | T2 or T3; N0, M0 | T2 = Tumor >2 cm but ≤4 cm.
II | T2 or T3; N0, M0 | T3 = Tumor >4 cm or with subserosal invasion or involvement of the mesoappendix.
II | T2 or T3; N0, M0 | N0 = No regional lymph node metastasis.
II | T2 or T3; N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Appendix. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 389–94.

Table 16. Definitions of TNM Stage III Neuroendocrine Tumors of the Appendix^a^

Stage | TNM | Description
III | T1, T2, T3, or T4; N1; M0 | T1, T2, T3, or T4 = See Stage IV Neuroendocrine Tumors of the Appendix below in Table 17.
III | T1, T2, T3, or T4; N1; M0 | N1 = Regional lymph node metastasis.
III | T1, T2, T3, or T4; N1; M0 | M0 = No distant metastasis.
III | T4, N0, M0 | T4 = Tumor perforates the peritoneum or directly invades other adjacent organs or structures (excluding direct mural extension to adjacent subserosa of adjacent bowel), e.g., abdominal wall and skeletal muscle.
III | T4, N0, M0 | N0 = No regional lymph node metastasis.
III | T4, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Appendix. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 389–94.

Table 17. Definitions of TNM Stage IV Neuroendocrine Tumors of the Appendix^a^

Stage | TNM | Description
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | TX = Primary tumor cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T0 = No evidence of primary tumor.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T1 = Tumor ≤2 cm in greatest dimension.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T2 = Tumor >2 cm but ≤4 cm.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T3 = Tumor >4 cm or with subserosal invasion or involvement of the mesoappendix.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | T4 = Tumor perforates the peritoneum or directly invades other adjacent organs or structures (excluding direct mural extension to adjacent subserosa of adjacent bowel), e.g., abdominal wall and skeletal muscle.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | NX = Regional lymph nodes cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | N0 = No regional lymph node metastasis.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | N1 = Regional lymph node metastasis.
IV | TX, T0, T1, T2, T3, or T4; NX, N0, N1; M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Appendix. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 389–94.

#### Colonic and rectal neuroendocrine tumors

Table 18. Definitions of TNM Stage I Neuroendocrine Tumors of the Colon and Rectum^a^

Stage | T^b^NM | Description
I | T1, N0, M0 | T1 = Tumor invades the lamina propria or submucosa and is ≤2 cm.
I | T1, N0, M0 | N0 = No regional lymph node metastasis has occurred.
I | T1, N0, M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Colon and Rectum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 395–406.

^b^The explanation for superscript b is at the end of Table 21.

Table 19. Definitions of TNM Stages IIA and IIB Neuroendocrine Tumors of the Colon and Rectum^a^

Stage | T^b^NM | Description
IIA | T2, N0, M0 | T2 = Tumor invades the muscularis propria or is >2 cm with invasion of the lamina propria or submucosa.
IIA | T2, N0, M0 | N0 = No regional lymph node metastasis has occurred.
IIA | T2, N0, M0 | M0 = No distant metastasis.
IIB | T3, N0, M0 | T3 = Tumor invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.
IIB | T3, N0, M0 | N0 = No regional lymph node metastasis has occurred.
IIB | T3, N0, M0 | M0 = No distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Colon and Rectum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 395–406.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^b^The explanation for superscript b is at the end of Table 21.

Table 20. Definitions of TNM Stage IIIA and IIIB Neuroendocrine Tumors of the Colon and Rectum^a^

Stage | T^b^NM | Description
IIIA | T4, N0, M0 | T4 = Tumor invades the visceral peritoneum (serosa) or other organs or adjacent structures.
IIIA | T4, N0, M0 | N0 = No regional lymph node metastasis has occurred.
IIIA | T4, N0, M0 | M0 = No distant metastasis.
IIIB | T1, T2, T3, or T4; N1; M0 | T1 = Tumor invades the lamina propria or submucosa and is ≤2 cm.
IIIB | T1, T2, T3, or T4; N1; M0 | T2 = Tumor invades the muscularis propria or is >2 cm with invasion of the lamina propria or submucosa.
IIIB | T1, T2, T3, or T4; N1; M0 | T3 = Tumor invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.
IIIB | T1, T2, T3, or T4; N1; M0 | T4 = Tumor invades the visceral peritoneum (serosa) or other organs or adjacent structures.
IIIB | T1, T2, T3, or T4; N1; M0 | N1 = Regional lymph node metastasis.
IIIB | T1, T2, T3, or T4; N1; M0 | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Colon and Rectum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 395–406.

^b^The explanation for superscript b is at the end of Table 21.

Table 21. Definitions of TNM Stage IV Neuroendocrine Tumors of the Colon and Rectum^a^

Stage | T^b^NM | Description
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | TX = Primary tumor cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | T0 = No evidence of primary tumor.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | T1 = Tumor invades the lamina propria or submucosa and is ≤2 cm.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | T2 = Tumor invades the muscularis propria or is >2 cm with invasion of the lamina propria or submucosa.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | T3 = Tumor invades through the muscularis propria into subserosal tissue without penetration of overlying serosa.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | T4 = Tumor invades the visceral peritoneum (serosa) or other organs or adjacent structures.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | NX = Regional lymph nodes cannot be assessed.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | N0 = No regional lymph node metastasis has occurred.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | N1 = Regional lymph node metastasis.
IV | TX, T0, T1, T2, T3, or T4; Any N; M1 | M1 = Distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis.

^a^Reprinted with permission from AJCC: Neuroendocrine Tumors of the Colon and Rectum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 395–406.

^b^For any T, add (m) for multiple tumors [TX(#) or TX(m), where X = 1−4 and # = number of primary tumors identified^c^]; for multiple tumors with different T, use the highest.

^c^Example: If there are two primary tumors, only one of which invades through the muscularis propria into the subserosal tissue without penetration of the overlying serosa, we define the primary tumor as either T3(2) or T3(m).

### References

Neuroendocrine tumors of the stomach. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 351–9.
Neuroendocrine tumors of the duodenum and ampulla of vater. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 361–73.
Neuroendocrine tumors of the jejunum and ileum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 375–87.
Neuroendocrine tumors of the appendix. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 389–94.
Neuroendocrine tumors of the colon and rectum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 395–406.
Neuroendocrine tumors of the pancreas. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp. 407–19.

## Treatment Option Overview for Gastrointestinal Neuroendocrine Tumors

Treatment options for patients with gastrointestinal neuroendocrine (carcinoid) tumors include:

- Surgery.
- Somatostatin analogues.
- Interferons.
- Treatment of hepatic metastases.
- Radionuclides.
- Management of neuroendocrine tumor–related fibrosis.
- Symptomatic therapy.
- Molecular-targeted therapies (under clinical evaluation).
- Therapies for symptomatic relief.
- Antifibrotic therapies (under clinical evaluation).[1]

### Surgery

The only potentially curative therapy for gastrointestinal neuroendocrine tumors, which may be possible in as many as 20% of patients, is resection of the primary tumor and local lymph nodes.[2-4] Endoscopic surgery may be suitable for some tumors depending on the location, number, size, and degree of malignancy.[4] Resection of nonhepatic tumor primaries is associated with increased median survival ranging from 69 to 139 months.[5,6] However, the extent of resection depends on the site of origin of a given tumor, the involvement of surrounding structures, and the extent of metastases.[1]

### Somatostatin Analogues

The development of long-acting and depot formulations of somatostatin analogues has been important in the amelioration of symptoms of carcinoid syndrome. The result has been a substantial improvement in quality of life with relatively mild adverse effects.[1,7] The inhibitory effects of somatostatin on neurotransmission, motor and cognitive functions, smooth muscle contractility, glandular and exocrine secretions, intestinal motility, and absorption of nutrients and ions are mediated by cyclic adenosine monophosphate inhibition.[8,9] Experimentally, somatostatin has been shown to have a cytostatic effect on tumor cells. This effect involves hyperphosphorylation of the retinoblastoma gene product and G1 cell cycle arrest, in addition to somatostatin receptor (SSTR) subtype 3 [sst(3)]-mediated (and to a lesser extent, SSTR subtype [sst(2)]-mediated) apoptosis.[10-12] Somatostatin also appears to have some antiangiogenic properties.[1] However, only a small number of patients treated with somatostatin analogue therapy experience partial tumor regression.[1,4]

Available somatostatin analogues display high affinity for sst(2) and SSTR subtype 5, low affinity for SSTR subtype 1 and SSTR subtype 4, and medium affinity for sst(3). For more information, see the Somatostatin receptor scintigraphy section. Octreotide, a short-acting somatostatin analogue and the first biotherapeutic agent used in the management of neuroendocrine tumors, exhibits beneficial effects that are limited to symptom relief, with about 70% of patients experiencing resolution of diarrhea or flushing. [1,4]

In the treatment of neuroendocrine tumors, lanreotide, a long-acting somatostatin analogue administered every 10 to 14 days, has an efficacy similar to that of octreotide and an agreeable formulation for patient use.[13] The effects of lanreotide on symptom relief are comparable to those of octreotide, with 75% to 80% of patients reporting decreased diarrhea and flushing; however, there appears to be little improvement in tumor responses over shorter-acting octreotide.[1] Depot formulations include long-acting repeatable (LAR) octreotide and a slow-release depot preparation of lanreotide. One study comparing subcutaneous short-acting octreotide with monthly LAR octreotide reported an increased median survival from the time of metastatic disease diagnosis (143 months vs. 229 months in favor of the LAR form), representing a 66% lower risk of death among patients treated with the LAR formulation.[14] A randomized controlled study in patients with metastatic midgut neuroendocrine tumors showed improved time to tumor progression with monthly LAR octreotide compared with placebo. For more information, see the Treatment of Jejunal and Ileal Neuroendocrine Tumors section.

The typical duration of treatment with somatostatin analogues is approximately 12 months because of the development of tachyphylaxis (reported less frequently with long-acting formulations) and/or disease progression.[15-17] In the management of carcinoid crises, intravenous somatostatin analogues are effective; crises are usually precipitated by anesthesia, surgical interventions, or radiologic interventions.[18] Adverse effects of somatostatin analogue administration include:[19,20]

- Nausea.
- Cramping.
- Loose stools.
- Steatorrhea.
- Cardiac conduction abnormalities and arrhythmias.
- Endocrine disturbances (e.g., hypothyroidism, hypoglycemia, or, more commonly, hyperglycemia).
- Gastric atony (rarely).

Biliary sludge and cholelithiasis occur in as many as 50% of the patients, but few patients (1%–3%) develop acute symptoms requiring cholecystectomy.[21]

### Interferons

The most researched interferon in the treatment of neuroendocrine tumors is interferon alfa (IFN alfa). Comparable to somatostatin analogues, the most pronounced effects of IFN alfa are inhibition of disease progression and symptom relief, with approximately 75% of patients reporting the resolution of diarrhea or flushing.[1] IFN alfa, like other IFNs studied in the treatment of neuroendocrine tumors (e.g., IFN gamma and human leukocyte interferon), has substantial adverse effects, including alopecia, anorexia, fatigue, weight loss, fever, a flu-like syndrome, and myelosuppression. However, IFN alfa may show greater antitumor activity than somatostatin analogues.[13] Both single-agent and multiagent chemotherapeutics appear to have little role in the management of these essentially chemoresistant tumors; no protocol has shown objective tumor response rates greater than 15%.[1]

### Treatment of Hepatic Metastases

The management of hepatic metastases may include surgical resection; hepatic artery embolization; cryoablation and radiofrequency ablation (RFA); and orthotopic liver transplant.[1] In one large review of 120 patients with neuroendocrine tumors, a biochemical response rate of 96% and a 5-year survival rate of 61% were reported for patients whose hepatic metastases were resected surgically.[22] The 5-year survival rate without surgical therapy was approximately 30%.[4] For hepatic artery embolization, the most frequently used single agent is gelatin powder. In more than 60 patients with neuroendocrine tumors, the use of gelatin powder resulted in 34% and 42% of patients achieving biochemical and tumor-diminution responses, respectively.[23-25] Trials using transcatheter arterial occlusion with chemoembolization have also been performed, with the most thoroughly researched combination involving hepatic artery ligation with gelatin foam and doxorubicin (4 trials and 66 patients), resulting in biochemical responses in 71% of patients and tumor regression in approximately 50% of patients.[1] However, the duration of response can be short lived after embolization, and embolization may be associated with adverse effects that range from transient symptoms (e.g., pain, nausea, fever, and fatigue), which occur in 30% to 70% of patients, to liver enzyme abnormalities, which occur in as many as 100% of patients (i.e., transaminitis and postembolization syndrome), to florid and potentially lethal carcinoid crisis with massive release of vasoactive substances.[4]

In one prospective trial, 80 RFA sessions were performed in 63 patients with neuroendocrine hepatic metastases (including 36 carcinoids), and 92% of the patients reported at least partial symptom relief. In the same 63 patients, 70% had significant or complete relief at 1 week postoperatively, with a perioperative morbidity of 5%; duration of symptom control was 11 ± 2.3 months, and median survival time was 3.9 years after the first RFA.[26] There are few trials of cryoablation of hepatic metastases, and the results of liver transplant for metastatic disease are disappointing, reflecting the typically advanced disease states of transplant recipients.[1]

Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Radionuclides

The four radionuclide conjugates most commonly used in the treatment of neuroendocrine tumors are iodine I 131-metaiodobenzylguanidine (131I-MIBG), indium In 111 (111In), yttrium Y 90, and lutetium Lu 177 (177Lu), with the latter three bound to a variety of somatostatin analogues. However, the median tumor response rate for the patients treated with 131I-MIBG is less than 5%, although the modality appears somewhat more effective in achieving biochemical stability (~50%) or tumor stability (~70%).[1] Although 111In-labeled somatostatin analogues are the most commonly studied radiopeptides to date, largely reflecting their availability, and with therapeutic benefits similar to 131I-MIBG, the most promising advance in radiopeptide therapeutics has been the development of 177Lu-octreotate, which emits both beta and gamma radiation.[1] In the largest patient series treated to date with lutetium-labeled somatostatin analogues (n = 131; 65 with gastrointestinal neuroendocrine tumors), remission rates were correlated positively with high pretherapy octreotide scintigraphy uptake and limited hepatic tumor load.[27] In patients with extensive liver involvement, median time to progression was shorter (26 months) compared with patients who had either stable disease or tumor regression (>36 months).

### Management of Neuroendocrine Tumor–Related Fibrosis

Bowel obstruction secondary to peritoneal fibrosis is the most common presenting symptom of small intestinal neuroendocrine tumors. Heart failure secondary to right-sided valvular fibrosis represents a serious extraintestinal manifestation of neuroendocrine tumor–related fibrosis. It occurs in 20% to 70% of patients with metastatic disease and it accounts for as much as 50% of neuroendocrine tumor mortality.[28,29] There is no effective pharmacological therapy for either clinical problem. In the instance of bowel obstruction, surgical lysis of the adhesions often is technically demanding because of the cocoon-like effects of extensive fibrosis stimulated by the various tumor-derived growth factors.[30] Valvular replacement usually is required to manage carcinoid heart disease.[1]

### Symptomatic Therapy

In addition to the use of long-acting depot formulations of somatostatin analogues to ameliorate neuroendocrine tumor symptoms, supportive care of patients includes:

- Advising them to avoid factors that induce flushing or bronchospastic episodes, including:
  - Ingestion of alcohol, certain cheeses, capsaicin-containing foods, and nuts.
  - Stressful situations.
  - Some kinds of physical activity.
- Diarrhea may be treated with conventional antidiarrheal agents such as loperamide or diphenoxylate; more pronounced diarrhea may be treated with the 5-HT receptor subtype 2 antagonist cyproheptadine, which is effective in as many as 50% of patients and may also help alleviate anorexia or cachexia in patients with a malignant carcinoid syndrome.[1]
- Histamine 1 receptor blockade with fexofenadine, loratadine, terfenadine, or diphenhydramine may help treat skin rashes, particularly in histamine-secreting gastric neuroendocrine tumors.
- Bronchospasm can be managed with theophylline or beta-2 adrenergic receptor agonists such as albuterol.[1]

Carcinoid crisis is manifested by profound flushing, extreme blood pressure fluctuations, bronchoconstriction, dysrhythmias, and confusion or stupor lasting hours or days and may be provoked by induction of anesthesia or an invasive radiologic procedure.[18,31] This potentially fatal condition can occur after manipulation of tumor masses (including bedside palpation), administration of chemotherapy, or hepatic arterial embolization.[32] In contrast with the treatment of other causes of acute hypotension, the use of calcium and catecholamines should be avoided in carcinoid crisis because these agents provoke the release of bioactive tumor mediators that may perpetuate or worsen the situation. Plasma infusion and octreotide are used for hemodynamic support. For the most part, the use of somatostatin analogues has replaced other pharmacological maneuvers in the treatment of crises, and their use has been associated with increased survival rates. Prophylactic use of subcutaneous octreotide or the administration of a depot somatostatin analogue in a timely fashion before any procedures are undertaken is mandatory to prevent the development of a crisis.[1]

### Molecular-Targeted Therapies

Various therapies targeting vascular endothelial growth factor (VEGF), platelet-derived growth factor receptor, and mammalian target of rapamycin (mTOR) are in development.[1,33] Therapeutic agents under investigation include the VEGF monoclonal antibody, bevacizumab and VEGF tyrosine kinase inhibitors, sunitinib, vatalanib, and sorafenib.

### General Therapeutic Approaches

As might be expected, therapeutic approaches to gastrointestinal neuroendocrine tumors vary according to anatomical location. In 2004, a consensus statement regarding the diagnosis and treatment of gastrointestinal neuroendocrine tumors was published on behalf of the European Neuroendocrine Tumor Society,[4] which details site-specific approaches to treatment.

### References

Modlin IM, Latich I, Kidd M, et al.: Therapeutic options for gastrointestinal carcinoids. Clin Gastroenterol Hepatol 4 (5): 526-47, 2006.16630755
Rothmund M, Kisker O: Surgical treatment of carcinoid tumors of the small bowel, appendix, colon and rectum. Digestion 55 (Suppl 3): 86-91, 1994.7698543
Loftus JP, van Heerden JA: Surgical management of gastrointestinal carcinoid tumors. Adv Surg 28: 317-36, 1995.7879684
Plöckinger U, Rindi G, Arnold R, et al.: Guidelines for the diagnosis and treatment of neuroendocrine gastrointestinal tumours. A consensus statement on behalf of the European Neuroendocrine Tumour Society (ENETS). Neuroendocrinology 80 (6): 394-424, 2004.15838182
McEntee GP, Nagorney DM, Kvols LK, et al.: Cytoreductive hepatic surgery for neuroendocrine tumors. Surgery 108 (6): 1091-6, 1990.1701060
Søreide O, Berstad T, Bakka A, et al.: Surgical treatment as a principle in patients with advanced abdominal carcinoid tumors. Surgery 111 (1): 48-54, 1992.1728075
Welin SV, Janson ET, Sundin A, et al.: High-dose treatment with a long-acting somatostatin analogue in patients with advanced midgut carcinoid tumours. Eur J Endocrinol 151 (1): 107-12, 2004.15248829
Bruns C, Weckbecker G, Raulf F, et al.: Molecular pharmacology of somatostatin-receptor subtypes. Ann N Y Acad Sci 733: 138-46, 1994.7978861
Lambert P, Minghini A, Pincus W, et al.: Treatment and prognosis of primary malignant small bowel tumors. Am Surg 62 (9): 709-15, 1996.8751760
Schally AV: Oncological applications of somatostatin analogues. Cancer Res 48 (24 Pt 1): 6977-85, 1988.2903792
Patel YC, Greenwood MT, Panetta R, et al.: The somatostatin receptor family. Life Sci 57 (13): 1249-65, 1995.7674817
Reisine T, Bell GI: Molecular biology of somatostatin receptors. Endocr Rev 16 (4): 427-42, 1995.8521788
Oberg K, Kvols L, Caplin M, et al.: Consensus report on the use of somatostatin analogs for the management of neuroendocrine tumors of the gastroenteropancreatic system. Ann Oncol 15 (6): 966-73, 2004.15151956
Anthony LB, Kang Y, Shyr Y, et al.: Malignant carcinoid syndrome: survival in the octreotide LAR era. [Abstract] J Clin Oncol 23 (Suppl 16): A-4084, 328s, 2005.
Corleto VD, Angeletti S, Schillaci O, et al.: Long-term octreotide treatment of metastatic carcinoid tumor. Ann Oncol 11 (4): 491-3, 2000.10847473
Aparicio T, Ducreux M, Baudin E, et al.: Antitumour activity of somatostatin analogues in progressive metastatic neuroendocrine tumours. Eur J Cancer 37 (8): 1014-9, 2001.11334727
Kölby L, Persson G, Franzén S, et al.: Randomized clinical trial of the effect of interferon alpha on survival in patients with disseminated midgut carcinoid tumours. Br J Surg 90 (6): 687-93, 2003.12808615
Ahlman H, Nilsson O, Wängberg B, et al.: Neuroendocrine insights from the laboratory to the clinic. Am J Surg 172 (1): 61-7, 1996.8686805
Oberg K: Future aspects of somatostatin-receptor-mediated therapy. Neuroendocrinology 80 (Suppl 1): 57-61, 2004.15477719
Lamberts SW, van der Lely AJ, Hofland LJ: New somatostatin analogs: will they fulfil old promises? Eur J Endocrinol 146 (5): 701-5, 2002.11980627
Sahin M, Kartal A, Belviranli M, et al.: Effect of octreotide (Sandostatin 201-995) on bile flow and bile components. Dig Dis Sci 44 (1): 181-5, 1999.9952241
Sarmiento JM, Heywood G, Rubin J, et al.: Surgical treatment of neuroendocrine metastases to the liver: a plea for resection to increase survival. J Am Coll Surg 197 (1): 29-37, 2003.12831921
Nobin A, Månsson B, Lunderquist A: Evaluation of temporary liver dearterialization and embolization in patients with metastatic carcinoid tumour. Acta Oncol 28 (3): 419-24, 1989.2742780
Wängberg B, Westberg G, Tylén U, et al.: Survival of patients with disseminated midgut carcinoid tumors after aggressive tumor reduction. World J Surg 20 (7): 892-9; discussion 899, 1996.8678968
Eriksson BK, Larsson EG, Skogseid BM, et al.: Liver embolizations of patients with malignant neuroendocrine gastrointestinal tumors. Cancer 83 (11): 2293-301, 1998.9840528
Mazzaglia PJ, Berber E, Milas M, et al.: Laparoscopic radiofrequency ablation of neuroendocrine liver metastases: a 10-year experience evaluating predictors of survival. Surgery 142 (1): 10-9, 2007.17629995
Kwekkeboom DJ, Teunissen JJ, Bakker WH, et al.: Radiolabeled somatostatin analog [177Lu-DOTA0,Tyr3]octreotate in patients with endocrine gastroenteropancreatic tumors. J Clin Oncol 23 (12): 2754-62, 2005.15837990
Modlin IM, Shapiro MD, Kidd M: Carcinoid tumors and fibrosis: an association with no explanation. Am J Gastroenterol 99 (12): 2466-78, 2004.15571597
Zuetenhorst JM, Bonfrer JM, Korse CM, et al.: Carcinoid heart disease: the role of urinary 5-hydroxyindoleacetic acid excretion and plasma levels of atrial natriuretic peptide, transforming growth factor-beta and fibroblast growth factor. Cancer 97 (7): 1609-15, 2003.12655516
Akerström G, Hellman P, Hessman O, et al.: Management of midgut carcinoids. J Surg Oncol 89 (3): 161-9, 2005.15719373
Kinney MA, Warner ME, Nagorney DM, et al.: Perianaesthetic risks and outcomes of abdominal surgery for metastatic carcinoid tumours. Br J Anaesth 87 (3): 447-52, 2001.11517130
Kharrat HA, Taubin H: Carcinoid crisis induced by external manipulation of liver metastasis. J Clin Gastroenterol 36 (1): 87-8, 2003.12488725
Yao JC: Neuroendocrine tumors. Molecular targeted therapy for carcinoid and islet-cell carcinoma. Best Pract Res Clin Endocrinol Metab 21 (1): 163-72, 2007.17382271

## Treatment of Gastric Neuroendocrine Tumors

Type I gastric neuroendocrine (carcinoid) tumors smaller than 1 cm are indolent with minimal risk for invasion and can be removed with endoscopic mucosal resection.[1-3] Local surgical excision may be performed for rare larger or invasive tumors, but exceptional cases with large multifocal lesions may require gastric resection. Follow-up with yearly endoscopic surveillance and repeated gastroscopy with multiple gastric biopsies is required, and treatment with somatostatin analogues may prevent recurrence.[4]

For type II neuroendocrine tumors, surgery is focused on removing the source of hypergastrinemia, typically by excision of duodenal gastrinomas in patients with multiple endocrine neoplasia type I via duodenotomy with resection of lymph node metastases.[5-7] Because of their generally benign course similar to type I tumors, type II tumors can usually be managed with endoscopic resection (particularly for tumors <1 cm), followed by close endoscopic surveillance.[1,3] Liberal surgical excision or gastric resection with regional lymphadenectomy is performed for larger and multifocal tumors or for those with deep wall invasion or angioinvasion.[3] In patients with multiple tumors, somatostatin analogue treatment may be used to reduce tumor growth, particularly if hypergastrinemia has not been reversed by surgery.[4]

Sporadic type III gastric neuroendocrine tumors, which behave more aggressively than type I and type II tumors, are treated with gastric resection and regional lymphadenectomy.[3] Tumors larger than 2 cm or those with atypical histology or gastric wall invasion are most appropriately dealt with by gastrectomy or radical gastrectomy.[1,8,9] Most of these tumors are metastatic at the time of presentation.[8] The 5-year survival rate may approach 50%, but, in patients with distant metastases, it is only 10%.[10,11]

Subtyping gastric neuroendocrine tumors is helpful in the prediction of malignant potential and long-term survival and as a guide to management.[12] Based on a combined population from 24 Swedish hospitals, one study of 65 patients with gastric neuroendocrine tumors (51 type I, 1 type II, 4 type III, and 9 poorly differentiated [designated as type IV in the study]), management varied according to tumor type. Among all of the patients, 3 received no specific treatment, 40 underwent endoscopic or surgical excision (in 10 cases combined with antrectomy), 7 underwent total gastrectomy, and 1 underwent proximal gastric resection. Radical tumor removal could not be performed in 2 of 4 patients with type III tumors and in 7 of 9 patients with poorly differentiated tumors. For more information, see the Cellular and Pathological Classification of Gastrointestinal Neuroendocrine Tumors section. Five- and 10-year crude survival rates were 96.1% and 73.9%, respectively, for type I tumors (not different from the general population) but only 33.3% and 22.2% for poorly differentiated gastric neuroendocrine tumors.[12][Level of evidence C2]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Kulke MH: Neuroendocrine tumours: clinical presentation and management of localized disease. Cancer Treat Rev 29 (5): 363-70, 2003.12972355
Ichikawa J, Tanabe S, Koizumi W, et al.: Endoscopic mucosal resection in the management of gastric carcinoid tumors. Endoscopy 35 (3): 203-6, 2003.12584637
Akerström G, Hellman P: Surgery on neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 87-109, 2007.17382267
Delle Fave G, Capurso G, Milione M, et al.: Endocrine tumours of the stomach. Best Pract Res Clin Gastroenterol 19 (5): 659-73, 2005.16253892
Bordi C, Falchetti A, Azzoni C, et al.: Aggressive forms of gastric neuroendocrine tumors in multiple endocrine neoplasia type I. Am J Surg Pathol 21 (9): 1075-82, 1997.9298884
Richards ML, Gauger P, Thompson NW, et al.: Regression of type II gastric carcinoids in multiple endocrine neoplasia type 1 patients with Zollinger-Ellison syndrome after surgical excision of all gastrinomas. World J Surg 28 (7): 652-8, 2004.15383867
Norton JA, Melcher ML, Gibril F, et al.: Gastric carcinoid tumors in multiple endocrine neoplasia-1 patients with Zollinger-Ellison syndrome can be symptomatic, demonstrate aggressive growth, and require surgical treatment. Surgery 136 (6): 1267-74, 2004.15657586
Rindi G, Bordi C, Rappel S, et al.: Gastric carcinoids and neuroendocrine carcinomas: pathogenesis, pathology, and behavior. World J Surg 20 (2): 168-72, 1996.8661813
Rindi G, Azzoni C, La Rosa S, et al.: ECL cell tumor and poorly differentiated endocrine carcinoma of the stomach: prognostic evaluation by pathological analysis. Gastroenterology 116 (3): 532-42, 1999.10029611
Modlin IM, Kidd M, Latich I, et al.: Current status of gastrointestinal carcinoids. Gastroenterology 128 (6): 1717-51, 2005.15887161
Akerström G, Hellman P, Hessman O: Gastrointestinal carcinoids. In: Lennard TWJ, ed.: Endocrine Surgery. 4th ed. WB Saunders Ltd, 2009, pp 147-76.
Borch K, Ahrén B, Ahlman H, et al.: Gastric carcinoids: biologic behavior and prognosis after differentiated treatment in relation to type. Ann Surg 242 (1): 64-73, 2005.15973103

## Treatment of Duodenal Neuroendocrine Tumors

Duodenal neuroendocrine (carcinoid) tumors are rare, and there is no consensus on the optimal extent of surgical treatment.[1] In a retrospective review of 24 patients with a pathological diagnosis of duodenal neuroendocrine tumor, most tumors (89%) measured smaller than 2 cm in diameter, and most (85%) were limited to the mucosa or submucosa. Lymph node metastases were identified in surgical specimens in 7 (54%) of 13 patients in whom lymph nodes were examined, including 2 patients with tumors smaller than 1 cm, which were limited to the submucosa. At a mean follow-up of 46 months, the disease-specific survival rate was 100%, and only 2 patients had recurrences in regional lymph nodes. No patient was reported to have distant metastases or the carcinoid syndrome.[1][Level of evidence C1] The authors concluded that although duodenal neuroendocrine tumors are indolent, the presence of regional lymph node metastases cannot be predicted reliably on the basis of tumor size or depth of invasion, and their impact on survival is unclear.

In general, endoscopic excision of primary duodenal neuroendocrine tumors appears to be most appropriate for tumors smaller than 1 cm.[1] Duodenal neuroendocrine tumors smaller than 2 cm may be excised locally; for tumors between 1 cm and 2 cm, complete resection is ensured by operative full-thickness excision.[1,2] Follow-up endoscopy is indicated. Tumors larger than 1 cm may be difficult to remove completely endoscopically and should be evaluated with endoscopic ultrasonography before endoscopic resection is attempted because of their potential to invade beyond the submucosa.[3]

Appropriate management of tumors larger than 2 cm can be problematic.[2] However, in general, these tumors can be treated with operative full-thickness excision and regional lymphadenectomy. Lymphadenectomy is performed even in the face of negative preoperative imaging because of the high rate of lymph node metastasis for these tumors.[1]

In addition, some authors recommend that for tumors larger than 2 cm, a regional lymphadenectomy includes the lymph nodes in the following locations:

- Posterior to the duodenum and pancreatic head and anterior to the inferior vena cava.
- Posterolateral to the bile duct and portal vein.
- Anterior to the common hepatic artery.[1,4]

Regardless of the size of the primary tumor, abnormal lymph nodes detected on pretreatment imaging studies or at the time of surgery should be resected. Because little is known about the natural history of unresected, grossly evident lymph node metastases, nonoperative management might otherwise be supported. Node-positive patients should undergo continued radiographic surveillance regardless of the size of the primary tumor.[1]

Ampullary and periampullary duodenal neuroendocrine tumors deserve special consideration because they differ clinically, histologically, and immunohistochemically from neuroendocrine tumors that occur elsewhere in the duodenum.[5] Although their rarity precludes the establishment of any definitive natural history, these tumors appear to behave unpredictably and might be viewed as a distinct category of carcinoid tumor when treatment options are being considered.[2] Compared with tumors in other duodenal sites, even small (<1 cm) ampullary and periampullary neuroendocrine tumors exhibit distinctly different aggressive behavior, and they may metastasize early.[5,6]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Mullen JT, Wang H, Yao JC, et al.: Carcinoid tumors of the duodenum. Surgery 138 (6): 971-7; discussion 977-8, 2005.16360380
Zyromski NJ, Kendrick ML, Nagorney DM, et al.: Duodenal carcinoid tumors: how aggressive should we be? J Gastrointest Surg 5 (6): 588-93, 2001 Nov-Dec.12086896
Yoshikane H, Tsukamoto Y, Niwa Y, et al.: Carcinoid tumors of the gastrointestinal tract: evaluation with endoscopic ultrasonography. Gastrointest Endosc 39 (3): 375-83, 1993 May-Jun.8514069
Modlin IM, Latich I, Kidd M, et al.: Therapeutic options for gastrointestinal carcinoids. Clin Gastroenterol Hepatol 4 (5): 526-47, 2006.16630755
Makhlouf HR, Burke AP, Sobin LH: Carcinoid tumors of the ampulla of Vater: a comparison with duodenal carcinoid tumors. Cancer 85 (6): 1241-9, 1999.10189128
Hatzitheoklitos E, Büchler MW, Friess H, et al.: Carcinoid of the ampulla of Vater. Clinical characteristics and morphologic features. Cancer 73 (6): 1580-8, 1994.8156484

## Treatment of Jejunal and Ileal Neuroendocrine Tumors

At the time of diagnosis, 58% to 64% of patients with neuroendocrine (carcinoid) tumors of the small intestine have metastatic disease in the regional lymph nodes or the liver.[1] Early surgical treatment should include removal of the mesentery by wedge resection and resection of lymph node metastases surrounding the mesenteric artery and vein to preserve intestinal vascular supply and to limit the intestinal resection.[2] With grossly radical tumor resections, patients may remain symptom free for extended periods of time; however, because of the tenacity of neuroendocrine tumors, patients should undergo lifelong surveillance.

Surgical treatment for advanced neuroendocrine tumors involves prophylactic removal of mesenteric metastases early on because later the disease may become impossible to manage surgically.[3] Repeat surgery may be necessary if mesenteric metastases are left during primary surgery or have progressed after primary surgery.[2] These operations are difficult because of fibrosis between regions of the intestine, and surgery may result in fistulation, intestinal devascularization, or creation of a short bowel.[3] The 5-year survival rate is approximately 50% for those with inoperable liver metastases and approximately 40% for those with inoperable liver and mesenteric metastases.[4,5]

The effect of octreotide (long-acting repeatable, 30 mg intramuscularly every 28 days) on time to tumor progression in patients with metastatic midgut neuroendocrine tumors has been tested in a randomized placebo-controlled clinical trial.[6] Although the planned study accrual was 162 patients, because of slow accrual, it was stopped after 85 evaluable patients were enrolled. At an interim analysis, the median time to tumor progression was 14.3 months in the octreotide group versus 6 months in the placebo group (hazard ratio, 0.34; 95% confidence interval, 0.20–0.59; P < .0001). Quality of life was similar in both treatment groups. There was no difference in overall survival, but about three-quarters of the control group received octreotide at disease progression.[6][Level of evidence B1]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Modlin IM, Lye KD, Kidd M: A 5-decade analysis of 13,715 carcinoid tumors. Cancer 97 (4): 934-59, 2003.12569593
Akerström G, Hellman P: Surgery on neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 87-109, 2007.17382267
Makridis C, Rastad J, Oberg K, et al.: Progression of metastases and symptom improvement from laparotomy in midgut carcinoid tumors. World J Surg 20 (7): 900-6; discussion 907, 1996.8678969
Makridis C, Ekbom A, Bring J, et al.: Survival and daily physical activity in patients treated for advanced midgut carcinoid tumors. Surgery 122 (6): 1075-82, 1997.9426422
Hellman P, Lundström T, Ohrvall U, et al.: Effect of surgery on the outcome of midgut carcinoid disease with lymph node and liver metastases. World J Surg 26 (8): 991-7, 2002.12016480
Rinke A, Müller HH, Schade-Brittinger C, et al.: Placebo-controlled, double-blind, prospective, randomized study on the effect of octreotide LAR in the control of tumor growth in patients with metastatic neuroendocrine midgut tumors: a report from the PROMID Study Group. J Clin Oncol 27 (28): 4656-63, 2009.19704057

## Treatment of Appendiceal Neuroendocrine Tumors

Approximately 90% of appendiceal neuroendocrine (carcinoid) tumors measure smaller than 1 cm and are not located in the appendiceal base. These tumors can be consistently cured by appendectomy.[1]

Appendiceal neuroendocrine tumors larger than 2 cm require right-sided hemicolectomy and ileocecal lymphadenectomy because of the significant risk of metastasis.[1] For tumors measuring 1 to 2 cm, treatment is controversial, but hemicolectomy may be appropriate if there is invasion in the mesoappendix, if there is residual tumor in the resection margins, or in the presence of lymph node metastases. For same-size lesions confined to the appendiceal wall, appendectomy alone may carry a low risk for metastases. Acceptable indications for hemicolectomy may include operative specimens that show high proliferative activity (high Ki-67 index), high mitotic index, or signs of angioinvasion, but evidence is limited and histological parameters for risk evaluation in appendiceal neuroendocrine tumors measuring 1 cm to 2 cm requires definition.[1-3] Follow-up should be considered in patients for whom elevated serum chromogranin A may indicate the need for extended operation. Although survival is excellent with locoregional tumor, 10-year survival is approximately 30% with distant metastases.[1]

Goblet cell carcinoid or adenocarcinoid is a rare variant of appendiceal neuroendocrine tumor with mixed endocrine and exocrine features.[1] Often presenting with a diffusely inflamed appendix and occurring in patients at a later age (~50 years), these tumors are aggressive, often with peritoneal and ovarian metastases, and occasionally appearing as mucinous adenocarcinoma.[2-4] They do not express somatostatin receptors and cannot be visualized by indium In 111-octreotide scintigraphy. Goblet cell carcinoids are treated with right-sided hemicolectomy and lymphadenectomy in combination with chemotherapy. For disseminated tumors, aggressive surgical reduction including peritonectomy and oophorectomy may be required.[1] Goblet cell carcinoids have a 10-year survival rate of approximately 60%.[2]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Akerström G, Hellman P: Surgery on neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 87-109, 2007.17382267
Goede AC, Caplin ME, Winslet MC: Carcinoid tumour of the appendix. Br J Surg 90 (11): 1317-22, 2003.14598408
Stinner B, Rothmund M: Neuroendocrine tumours (carcinoids) of the appendix. Best Pract Res Clin Gastroenterol 19 (5): 729-38, 2005.16253897
Akerström G, Hellman P, Hessman O: Gastrointestinal carcinoids. In: Lennard TWJ, ed.: Endocrine Surgery. 4th ed. WB Saunders Ltd, 2009, pp 147-76.

## Treatment of Colonic Neuroendocrine Tumors

Colonic neuroendocrine (carcinoid) tumors are often exophytic and large (>5 cm), but they rarely bleed. Only occasional right-sided lesions are positive with indium In 111-octreotide scintigraphy. Many of these tumors are aggressive with a high proliferation rate, and they often present with more liver metastases than regional lymph node metastases.[1] These tumors of the colon are treated similarly to adenocarcinoma of the colon.[2] Attempts to achieve radical resection by hemicolectomy or subtotal colectomy with lymphadenectomy should be made, but frequently only debulking is possible. The overall 5-year survival rate is approximately 40% and is slightly worse than the survival rate for patients with colon adenocarcinoma.[1]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Akerström G, Hellman P: Surgery on neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 87-109, 2007.17382267
Plöckinger U, Rindi G, Arnold R, et al.: Guidelines for the diagnosis and treatment of neuroendocrine gastrointestinal tumours. A consensus statement on behalf of the European Neuroendocrine Tumour Society (ENETS). Neuroendocrinology 80 (6): 394-424, 2004.15838182

## Treatment of Rectal Neuroendocrine Tumors

In general, rectal neuroendocrine (carcinoid) tumors often present as very small, isolated lesions.[1] The TNM (tumor, node, metastasis) system is used for rectal neuroendocrine tumors, but size appears to be one of the best estimates of recurrence. Rectal neuroendocrine tumors should be evaluated by endoscopic ultrasonography (EUS) or rectal magnetic resonance imaging (MRI). Tumors smaller than 1 cm can be safely removed by endoscopic excision.[2-5] Excised specimens should be examined histologically to exclude muscularis invasion.[2,6-8]. A report about the patients with rectal carcinoid tumors in the Surveillance, Epidemiology, and End Results (SEER) Program database demonstrated that the 5-year survival rate for patients with stage I carcinoid tumors was 97%.[9]

For patients with tumors that are larger than 2 cm or that have invasion of the muscularis as seen by EUS or MRI, surgical resection with abdominoperineal resection (APR) or low anterior resection (LAR) is recommended because of the high rate of nodal metastases and risk of distant metastatic disease. In the report from the SEER database, patients with stage II or III rectal carcinoid tumors had 5-year survival rates of 84% and 20%, respectively.[9] In a report from the National Cancer Database, among 3,287 patients with rectal carcinoid tumors, the 5-year survival rates for patients with stage II or III disease were 87.3% and 35.5%, respectively.[10]

There is considerable debate about whether local excision or rectal resection (i.e., APR or LAR) is needed for tumors that measure 1 cm to 2 cm. Although it may be possible to recognize tumors with particular atypia and high mitotic index before embarking on the more radical surgery, the presence of muscularis invasion or regional metastases generally supports rectal resection. In a multicenter series of 100 patients who underwent anterior resection for rectal carcinoid tumors, the rate of nodal metastases for patients with tumors between 1 cm and 2 cm was 31%.[11] In this series, tumor size larger than 1 cm and lymphovascular invasion were the two strongest predictors of lymph node metastases. In patients with distant metastases, prognosis is generally poor, with an overall 5-year survival rate of approximately 30%.[12]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Soga J: Carcinoids of the rectum: an evaluation of 1271 reported cases. Surg Today 27 (2): 112-9, 1997.9017986
Koura AN, Giacco GG, Curley SA, et al.: Carcinoid tumors of the rectum: effect of size, histopathology, and surgical treatment on metastasis free survival. Cancer 79 (7): 1294-8, 1997.9083149
Kwaan MR, Goldberg JE, Bleday R: Rectal carcinoid tumors: review of results after endoscopic and surgical therapy. Arch Surg 143 (5): 471-5, 2008.18490556
Mani S, Modlin IM, Ballantyne G, et al.: Carcinoids of the rectum. J Am Coll Surg 179 (2): 231-48, 1994.8044398 94319602
Caplin M, Sundin A, Nillson O, et al.: ENETS Consensus Guidelines for the management of patients with digestive neuroendocrine neoplasms: colorectal neuroendocrine neoplasms. Neuroendocrinology 95 (2): 88-97, 2012.22261972
Suzuki H, Ikeda K: Endoscopic mucosal resection and full thickness resection with complete defect closure for early gastrointestinal malignancies. Endoscopy 33 (5): 437-9, 2001.11396763
Vogelsang H, Siewert JR: Endocrine tumours of the hindgut. Best Pract Res Clin Gastroenterol 19 (5): 739-51, 2005.16253898
Akerström G, Hellman P, Hessman O: Gastrointestinal carcinoids. In: Lennard TWJ, ed.: Endocrine Surgery. 4th ed. WB Saunders Ltd, 2009, pp 147-76.
Landry CS, Brock G, Scoggins CR, et al.: A proposed staging system for rectal carcinoid tumors based on an analysis of 4701 patients. Surgery 144 (3): 460-6, 2008.18707046
Chagpar R, Chiang YJ, Xing Y, et al.: Neuroendocrine tumors of the colon and rectum: prognostic relevance and comparative performance of current staging systems. Ann Surg Oncol 20 (4): 1170-8, 2013.23212760
Shields CJ, Tiret E, Winter DC, et al.: Carcinoid tumors of the rectum: a multi-institutional international collaboration. Ann Surg 252 (5): 750-5, 2010.21037430
Akerström G, Hellman P: Surgery on neuroendocrine tumours. Best Pract Res Clin Endocrinol Metab 21 (1): 87-109, 2007.17382267

## Treatment of Metastatic Gastrointestinal Neuroendocrine Tumors

Although the definitive role of surgery in patients with metastatic disease has not been established, conservative resections of the intestine, mesenteric tumors, and fibrotic areas may improve symptoms and quality of life substantially in patients with metastatic hepatic, mesenteric, and peritoneal neuroendocrine (carcinoid) tumors. If the condition of the patient is such that surgery is not a greater risk than the disease, the primary tumor should be resected to prevent an emergency presentation with obstruction, perforation, or bleeding.[1] Despite common acceptance that resection of at least 90% of the tumor burden is required to achieve palliation, approximately 60% of patients with surgery alone will experience symptom recurrence; the 5-year survival rate is between 35% and 80%, depending on the experience of the surgical center.[2,3] Because treatment with somatostatin analogues can achieve similar rates of symptom relief with fewer adverse effects, in each patient the benefits of surgical treatment of gastrointestinal neuroendocrine tumors should be weighed carefully against the potential risks of an open exploration. Tumor debulking, however, may potentiate pharmacological therapy by decreasing the secretion of bioactive substances.[4]

Management of hepatic metastases may include surgical resection; hepatic artery embolization; cryoablation and radiofrequency ablation; and orthotopic liver transplant. For more information, see the Treatment of Hepatic Metastases section. Cytoreductive surgery for hepatic metastases from gastrointestinal neuroendocrine tumors can be performed safely with minimal morbidity and mortality resulting in regression of symptoms and prolonged survival in most patients.[5] In one large review that included 120 patients with neuroendocrine tumors, a biochemical response rate of 96% and a 5-year survival rate of 61% were reported for patients whose hepatic metastases were resected surgically.[6][Level of evidence C2]

In the case of liver metastases, localization and resection of the primary tumor may be considered, even among patients in whom the primary neoplasm is asymptomatic. In a retrospective study involving 84 patients, 60 of whom had their primary neoplasm resected, the resected group had a greater median progression-free survival (PFS) of 56 months, compared with 25 months of PFS for the primary nonresected group (P < .001). Median survival time for the resected group was longer at 159 months when compared with 47 months for the nonresected group (P < .001).[7][Level of evidence C2]

Although the response of neuroendocrine tumors to external-beam radiation therapy is very limited, palliative radiation therapy has some efficacy for bone and brain metastases and in the management of spinal cord metastases.[4]

Treatment with single-agent chemotherapy or multiple-agent chemotherapy appears to be of little benefit in the management of gastrointestinal neuroendocrine tumors because no regimen has shown objective tumor response rates greater than 15%.[4]

Treatment with radionuclides such as iodine I 131-metaiodobenzylguanidine and lutetium Lu 177-octreotate may be of benefit. For more information, see the Radionuclides section.

Somatostatin analogues and interferon alfa are the primary agents used in the treatment of carcinoid syndrome. Management of the symptoms of carcinoid syndrome may also include dietary modification and the use of various antidiarrheal agents, antihistaminics for skin rashes, and theophylline or beta-2 adrenergic receptor agonists for bronchospasm. For more information, see the sections on Somatostatin Analogues, Interferons, and Symptomatic Therapy.

Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Läuffer JM, Zhang T, Modlin IM: Review article: current status of gastrointestinal carcinoids. Aliment Pharmacol Ther 13 (3): 271-87, 1999.10102959
McEntee GP, Nagorney DM, Kvols LK, et al.: Cytoreductive hepatic surgery for neuroendocrine tumors. Surgery 108 (6): 1091-6, 1990.1701060
Plöckinger U, Rindi G, Arnold R, et al.: Guidelines for the diagnosis and treatment of neuroendocrine gastrointestinal tumours. A consensus statement on behalf of the European Neuroendocrine Tumour Society (ENETS). Neuroendocrinology 80 (6): 394-424, 2004.15838182
Modlin IM, Latich I, Kidd M, et al.: Therapeutic options for gastrointestinal carcinoids. Clin Gastroenterol Hepatol 4 (5): 526-47, 2006.16630755
Hodul P, Malafa M, Choi J, et al.: The role of cytoreductive hepatic surgery as an adjunct to the management of metastatic neuroendocrine carcinomas. Cancer Control 13 (1): 61-71, 2006.16508628
Sarmiento JM, Heywood G, Rubin J, et al.: Surgical treatment of neuroendocrine metastases to the liver: a plea for resection to increase survival. J Am Coll Surg 197 (1): 29-37, 2003.12831921
Givi B, Pommier SJ, Thompson AK, et al.: Operative resection of primary carcinoid neoplasms in patients with liver metastases yields significantly better survival. Surgery 140 (6): 891-7; discussion 897-8, 2006.17188135

## Treatment of Recurrent Gastrointestinal Neuroendocrine Tumors

The prognosis for any patient with progressive or recurrent disease is poor. Decisions about further treatment depend on many factors, including previous treatment, site of recurrence, and individual patient considerations. Attempts at re-resecting slow-growing tumors (e.g., repeat or multiple liver resections) are worthy of consideration after extensive evaluation, as further reduction of tumor volume may provide long-term palliation. Recurrence at any single site may also be potentially resectable. Clinical trials are appropriate and should be considered when possible.

Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (05/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult gastrointestinal neuroendocrine tumors. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Gastrointestinal Neuroendocrine Tumors Treatment are:

- Amit Chowdhry, MD, PhD (University of Rochester Medical Center)
- Leon Pappas, MD, PhD (Massachusetts General Hospital )

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Gastrointestinal Neuroendocrine Tumors Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/gi-neuroendocrine-tumors/hp/gi-neuroendocrine-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389233]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).